# Planning the Transition to End-of-Life Care in Advanced Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about planning for end-of-life care in advanced cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

The American Cancer Society estimates that 618,120 Americans will die of cancer in 2025.[1] Anticipating the end of life (EOL) and making health care decisions about appropriate or preferred treatment or care near the EOL is intellectually challenging and emotionally distressing for patients with advanced cancer, their families and friends, oncology clinicians, and other professional caregivers. However, the adverse consequences of failing to plan for the transition to EOL care include the following:

- Increased psychological distress.
- Medical treatments inconsistent with personal preferences.
- Utilization of burdensome and expensive health care resources of little therapeutic benefit.
- A more difficult bereavement.

Oncologists and patients often avoid or delay planning for the EOL until the final weeks or days of life because of many potential factors. These factors can be at the individual, family, or societal levels. Evidence suggests, however, that many of these factors are not truly barriers and can be overcome.

The purpose of this summary is to review the evidence surrounding conversations about EOL care in advanced cancer to inform providers, patients, and families about the transition to compassionate and effective EOL care.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.

## Quality of End-of-Life Care in Patients With Advanced Cancer

Patients with advanced cancer, their family and friends, and oncology clinicians often are faced with treatment decisions that profoundly affect the patient’s quality of life (QOL). Oncology clinicians are obligated to explore, with the patient and family, the potential impact of continued disease-directed treatments or care directed at the patient’s symptoms and QOL.

This section summarizes information that will allow oncology clinicians and patients with advanced cancer to create a plan of care to improve QOL at the end of life (EOL) by making informed choices about the potential harms of continued aggressive treatment and the potential benefits of palliative or hospice care. This section:

- Reviews the concept of quality EOL care.
- Summarizes and evaluates the commonly cited indicators of quality EOL care.
- Explores the concept of a good death.

In addition, information about outcomes associated with cardiopulmonary resuscitation (CPR) and admission to the intensive care unit (ICU) at the EOL will allow the oncology clinician to better present options to patients with advanced cancer who are near the EOL.

### Quality of EOL Care

Questions relevant to measuring the quality of EOL care in patients with advanced cancer include the following:[1]

- Which evidence-based guidelines inform assessments of quality?
- What period defines the EOL?
- Are the quality indicators of interest accurate, readily available, and plausibly linked to desired outcomes?
- What constitutes high quality?
- Most important, is the patient’s perspective given precedence?

#### The patient perspective

Surveys and interviews of patients with life-threatening illnesses, not restricted to cancer, can contribute to the understanding of what constitutes high-quality EOL care. One group of researchers proposed that patients value five main domains of care near the EOL:[2]

- Receiving adequate pain and symptom management.
- Avoiding inappropriate prolongation of dying.
- Achieving a sense of control.
- Relieving burden.
- Strengthening relationships with loved ones.

A 2011 prospective study of QOL in a cohort of patients with advanced cancer seen in outpatient medical oncology clinics provides additional insight into the patient’s perspective of what contributes to a good QOL.[3] The median survival of the cohort was 10 months, so the results may not reflect the situation for patients closer to death. Nonetheless, the strongest predictors of QOL were the following:

- Older age.
- Good performance status.
- A survival time longer than 6 months.

Patients who were waiting for a new treatment had worse emotional well-being. This experience suggests that QOL is related to factors such as disease progression and its complications, and to patients’ goals relative to any treatment they are receiving.[3] In addition, other researchers have reported that family caregivers often report worse scores than patients with advanced cancer in self-assessments of the patients’ QOL.[4]

#### Indicators of EOL care quality

A variety of indicators have been proposed to measure the quality of EOL care in patients with advanced cancer. Several salient criticisms of the proposed indicators include the following:

1. Indicators are typically measured in a period before death that is defined retrospectively from death. Clinicians cannot predict whether an intervention will be futile in preventing death; consequently, quality concerns may be exaggerated if the indicator is dependent on the time to death.
2. Quality indicators may be insensitive to patient preferences. For example, a patient may prefer to receive chemotherapy close to death and forgo hospice enrollment. Conversely, the failure to deliver treatments consistent with guidelines may reflect patient refusals or medical contraindications to the recommended treatment. One study [5] demonstrated that adherence to six quality indicators in patients with lung cancer cared for in the Veterans Health Administration (VHA) was compromised by refusal (0%—14% of the time) or medical contraindications (1%—30% of the time), depending on the indicator.
3. Administrative databases do not capture data for all patients. For example, Centers for Medicare & Medicaid Services databases capture only the Medicare population.
4. Many indicators were not deliberately developed as measures of quality and may be insensitive to important outcomes.

Nonetheless, studying indicators over time or between different geographic regions, health systems, or subspecialties can provide important insights into quality EOL care.

#### Trends over time in indicators of EOL care quality

Multiple reports are relevant to understanding trends in EOL care quality indicators over time for a variety of cancers. The following observations are supported by a 2004 analysis,[6] with additional supporting citations indicated when relevant:

- Increasing numbers of patients start a new chemotherapy regimen within 30 days of death or continue to receive chemotherapy within 14 days of death.
- Increasing numbers of patients are referred to hospice; however, the length of stay in hospice remains relatively brief, supporting the concern that referrals to hospice may occur too late. For example, a 2011 study of men dying of prostate cancer demonstrated an increased utilization of hospice (approximately 32%–60%), but there was also an increase in the proportion of stays shorter than 7 days.[7]
- The rates of utilization of ICU stays have also increased. For example, one study [8] reported that for patients dying of pancreatic cancer, admissions to ICUs increased in two different time periods. From 1992 to 1994, ICU admissions increased from 15.5% to 19.6%; from 2004 to 2006, ICU admissions increased from 8.1% to 16.4%.
- Rates of do-not-resuscitate (DNR) orders have increased but remain close to death. A 2008 study of the rate and timing of DNR orders at a major cancer center between 2000 and 2005 demonstrated that the rates of DNR orders at the time of death increased from 83% to 86% for in-hospital deaths and from 28% to 52% for out-of-hospital deaths.[9] However, for inpatient deaths, the median time between signing the DNR and death was 0 days; for outpatient deaths, it was 30 days. This finding suggests that communication about resuscitation preferences is delayed. This delay may negatively affect patient preparation for the EOL.

#### Regional variations in indicators of EOL care quality

Regional variations in rates of utilization of health care resources near the EOL are of interest because the differences are rarely associated with improved outcomes. While initial findings focused on differences between geographic regions of the United States, subsequent studies have demonstrated potentially meaningful differences between or within health systems.[10] A brief summary of some notable variations follows.

- Compared with men enrolled in a fee-for-service Medicare product, older men with advanced cancer who received treatment through the VHA were less likely to receive chemotherapy within 14 days of death (4.6% vs. 7.5%), less likely to spend time in an ICU within 30 days of death (12.5% vs. 19.7%), and less likely to visit the emergency department more than once (13.1% vs. 14.7%).[11]
- An analysis of data by the Dartmouth Institute for Health Policy & Clinical Practice about the care of Medicare patients with poor prognoses demonstrated significant regional variations in EOL care.[12] The principal findings include the following:
  - Variations in the rate of hospitalizations, ICU stays, and aggressive interventions such as CPR and mechanical ventilation.
  - Variations in the use of chemotherapy in the last 14 days of life.
  - Variations in the use of hospice measured as rates of referral or lengths of stay.
  In the opinion of the authors, the observed regional variations were too large to be accounted for by racial or ethnic preferences or illness levels. Factors correlated with the aggressiveness of EOL care include the availability of resources such as the supply of ICU beds or imaging equipment, the number of doctors involved in each patient’s care, and the treatment setting itself.[12]

#### Factors associated with variations in EOL care

Availability of medical specialists, number of hospital beds, physician, and health system characteristics are well-established factors associated with increased expenditures in the final 6 months of life. A 2011 study [13] used data from decedents enrolled in the Health and Retirement Study, Medicare, and the Dartmouth Atlas to identify patient-level factors that may contribute to regional variations. The following factors were associated with higher expenditures, even after controlling for regional characteristics:

- Functional status decline.
- Hispanic ethnicity.
- Black race.
- Chronic diseases such as diabetes.

Patient-level factors accounted for only 10% of variations. EOL practice patterns and number of hospital beds per capita were also associated with higher expenditures. Advance care planning did not influence expenditures.[13]

A potential explanation for regional variations in EOL care is regional variations in patient preferences. The evidence, however, is conflicting.

- One study surveyed 2,515 Medicare beneficiaries about their general preferences for medical care in the event of a serious life-limiting illness with a life expectancy of less than 1 year.[14] The preferences were correlated with EOL spending by hospital referral region. There were no differences between preferences for palliation or life prolongation by region. Thus, it is unlikely that regional variations in preferences account for observed variation in EOL spending.
- Conversely, a secondary analysis of the potential influence of treatment site on the Coping with Cancer study outcomes demonstrated that the effect of treatment site partly resulted from differences in patient preferences.[15]

### The Good Death

#### The health care provider perspective

The concept of a good death is a controversial but potentially useful construct for the oncology clinician to more clearly formulate the goals of timely, compassionate, and effective EOL care. In a 2003 BMJ article about caring for the dying patient, the authors proposed that there were sufficient evidence-based guidelines to facilitate a good death. A commentary that accompanied the article stated, “Nor can professional education convey adequately just how important it is for individuals, both at the time and afterwards, to go through the death of someone they love feeling that they are experiencing a ‘good death.’”[16] Several salient points were made in subsequent letters to the editor:

- The mental health of the patient and family are essential concerns in providing a good death.
- Health care provider beliefs and attitudes may diminish the chances for a good death if they interfere with adequate pain or symptom control.
- Health care providers may risk medical paternalism if they are not respectful of a patient’s perspective and insist on EOL care or refuse to provide comfort measures that may shorten life.
- Religious faith and spiritual beliefs are important for many people near the EOL.
- A good death requires turning one's attention away from prolonging life.

#### The patient perspective

A landmark study of patients, families, and health care providers [17] surveyed seriously ill patients, bereaved caregivers, physicians, and other health care providers about what matters at the EOL. Respondents scored the importance of 44 attributes identified in previous interviews and focus groups in which participants were asked to define a good death. There was broad agreement about control of pain and other symptoms, communication, and preparation for death. However, certain attributes, such as not being a burden to one’s family or society or being at peace with God, were ranked as important by patients but less so by physicians. A population-based study in the Netherlands demonstrated a correlation between the respondents’ positive attitudes toward the concept of a good death and preferences that could potentially influence EOL decision making.[18]

Patients with advanced cancer may desire opportunities to prepare for the EOL. A survey of 469 patients who participated in a cluster-randomized trial of early palliative care [19,20] reported that better preparation was associated with higher scores related to the quality of communication with clinicians, older age, living alone, fewer symptoms, and spiritual well-being. Interestingly, 31% of respondents were worried about their family’s future coping. The results highlight the importance of offering patients an opportunity to discuss preparation for the EOL early and the fact that patients who favorably rate the quality of communication with their physicians feel more prepared.

#### The caregiver perspective

In one study,[21] formal and informal caregivers of 396 patients who died from advanced cancer were interviewed about the decedent’s QOL in the last week of life. The QOL was correlated with a variety of factors obtained via baseline interviews of decedents at the time of enrollment into the study and survey measures of coping styles, religious coping, religiousness/spirituality, and EOL preferences. Most variances in the QOL at the EOL were unexplained. However, factors negatively correlated with QOL included the following:

- Intensive care in the last week.
- Death in the hospital.
- Feeding tube in the final week.
- Chemotherapy in the final week of life.

Conversely, factors correlated with a higher QOL included the following:

- Prayer or meditation.
- Visits with chaplains.
- The perception that the physician was respectful, open to questions, and trustworthy.

### Outcomes After Potentially Life-Prolonging Interventions

#### CPR

CPR was initially developed to restore circulation in patients with predominantly cardiac insults. The outcomes after inpatient CPR in older adults have not improved significantly, in part because of the use of CPR in patients with comorbid life-threatening illnesses. Addressing the limited benefit of CPR during the transition to EOL care is made more difficult because in the United States, patients will undergo CPR unless there is an established DNR order in the medical chart to countermand the procedure. The following evidence demonstrates the limited value of CPR in patients with advanced cancer:

- A retrospective chart review of 41 patients who underwent CPR for an out-of-hospital cardiac arrest found that only 18 (43%) survived to be admitted to an ICU, and only 9 patients survived to be discharged (2 to home; 7 to a facility).[22] The authors noted that documentation of the advanced stage of disease and poor prognosis were frequently mentioned in the medical records.
- A meta-analysis of studies of survival after in-hospital CPR found that survival to discharge was 6.2% overall.[23] Patients with advanced-stage disease and hematological malignancy who underwent CPR in the ICU were less likely to survive.
- Researchers have described the extremely poor outcomes of patients who were resuscitated in the medical ICU.[24,25] Only 7 of 406 patients resuscitated (2%) survived to be discharged. The remainder died at the time of the arrest (63%) or within a mean of 4 days (26%).

#### Admission to an ICU

In addition to CPR, patients may require mechanical ventilation or admission to an ICU. Outcomes are poor for patients with advanced cancer. One study reported that the median survival of 212 patients with advanced cancer (who were referred to a phase I trial) was 3.2 weeks.[26] Patients who required CPR had a median survival of 1 day.

The underlying diagnosis, however, may be a critical variable in predicting patient outcome. Patients with hematologic malignancies may do better than patients with solid tumors. For example, one study reported that patients with newly diagnosed hematologic malignancies had a 60.7% chance of surviving to be discharged and a 1-year survival rate of 43.3%.[27] Multivariate analysis demonstrated that remission status and early admission to the ICU were favorable risk factors.

### References

Kendall M, Harris F, Boyd K, et al.: Key challenges and ways forward in researching the "good death": qualitative in-depth interview and focus group study. BMJ 334 (7592): 521, 2007.17329313
Singer PA, Martin DK, Kelner M: Quality end-of-life care: patients' perspectives. JAMA 281 (2): 163-8, 1999.9917120
Zimmermann C, Burman D, Swami N, et al.: Determinants of quality of life in patients with advanced cancer. Support Care Cancer 19 (5): 621-9, 2011.20349353
Jones JM, McPherson CJ, Zimmermann C, et al.: Assessing agreement between terminally ill cancer patients' reports of their quality of life and family caregiver and palliative care physician proxy ratings. J Pain Symptom Manage 42 (3): 354-65, 2011.21454041
Ryoo JJ, Ordin DL, Antonio AL, et al.: Patient preference and contraindications in measuring quality of care: what do administrative data miss? J Clin Oncol 31 (21): 2716-23, 2013.23752110
Earle CC, Neville BA, Landrum MB, et al.: Trends in the aggressiveness of cancer care near the end of life. J Clin Oncol 22 (2): 315-21, 2004.14722041
Bergman J, Saigal CS, Lorenz KA, et al.: Hospice use and high-intensity care in men dying of prostate cancer. Arch Intern Med 171 (3): 204-10, 2011.20937914
Sheffield KM, Boyd CA, Benarroch-Gampel J, et al.: End-of-life care in Medicare beneficiaries dying with pancreatic cancer. Cancer 117 (21): 5003-12, 2011.21495020
Levin TT, Li Y, Weiner JS, et al.: How do-not-resuscitate orders are utilized in cancer patients: timing relative to death and communication-training implications. Palliat Support Care 6 (4): 341-8, 2008.19006588
Newhouse JP, Garber AM: Geographic variation in health care spending in the United States: insights from an Institute of Medicine report. JAMA 310 (12): 1227-8, 2013.24008265
Keating NL, Landrum MB, Lamont EB, et al.: End-of-life care for older cancer patients in the Veterans Health Administration versus the private sector. Cancer 116 (15): 3732-9, 2010.20564065
Goodman DC, Morden NE, Chang CH, et al.: Trends in Cancer Care Near the End of Life: A Dartmouth Atlas of Health Care Brief. Lebanon, NH: Dartmouth Institute for Health Policy & Clinical Practice, 2013. Available online (https://www.dartmouthatlas.org/downloads/reports/Cancer_brief_090413.pdf). Last accessed Jan. 23, 2025.
Kelley AS, Ettner SL, Morrison RS, et al.: Determinants of medical expenditures in the last 6 months of life. Ann Intern Med 154 (4): 235-42, 2011.21320939
Barnato AE, Herndon MB, Anthony DL, et al.: Are regional variations in end-of-life care intensity explained by patient preferences?: A Study of the US Medicare Population. Med Care 45 (5): 386-93, 2007.17446824
Wright AA, Mack JW, Kritek PA, et al.: Influence of patients' preferences and treatment site on cancer patients' end-of-life care. Cancer 116 (19): 4656-63, 2010.20572030
Ellershaw J, Ward C: Care of the dying patient: the last hours or days of life. BMJ 326 (7379): 30-4, 2003.12511460
Steinhauser KE, Christakis NA, Clipp EC, et al.: Factors considered important at the end of life by patients, family, physicians, and other care providers. JAMA 284 (19): 2476-82, 2000.11074777
Rietjens JA, van der Heide A, Onwuteaka-Philipsen BD, et al.: Preferences of the Dutch general public for a good death and associations with attitudes towards end-of-life decision-making. Palliat Med 20 (7): 685-92, 2006.17060267
Zimmermann C, Swami N, Krzyzanowska M, et al.: Early palliative care for patients with advanced cancer: a cluster-randomised controlled trial. Lancet 383 (9930): 1721-30, 2014.24559581
Wentlandt K, Burman D, Swami N, et al.: Preparation for the end of life in patients with advanced cancer and association with communication with professional caregivers. Psychooncology 21 (8): 868-76, 2012.21648015
Zhang B, Nilsson ME, Prigerson HG: Factors important to patients' quality of life at the end of life. Arch Intern Med 172 (15): 1133-42, 2012.22777380
Hwang JP, Patlan J, de Achaval S, et al.: Survival in cancer patients after out-of-hospital cardiac arrest. Support Care Cancer 18 (1): 51-5, 2010.19350284
Reisfield GM, Wallace SK, Munsell MF, et al.: Survival in cancer patients undergoing in-hospital cardiopulmonary resuscitation: a meta-analysis. Resuscitation 71 (2): 152-60, 2006.16987581
Ewer MS, Kish SK, Martin CG, et al.: Characteristics of cardiac arrest in cancer patients as a predictor of survival after cardiopulmonary resuscitation. Cancer 92 (7): 1905-12, 2001.11745264
Wallace S, Ewer MS, Price KJ, et al.: Outcome and cost implications of cardiopulmonary resuscitation in the medical intensive care unit of a comprehensive cancer center. Support Care Cancer 10 (5): 425-9, 2002.12136227
Fu S, Hong DS, Naing A, et al.: Outcome analyses after the first admission to an intensive care unit in patients with advanced cancer referred to a phase I clinical trials program. J Clin Oncol 29 (26): 3547-52, 2011.21844494
Azoulay E, Mokart D, Pène F, et al.: Outcomes of critically ill patients with hematologic malignancies: prospective multicenter data from France and Belgium--a groupe de recherche respiratoire en réanimation onco-hématologique study. J Clin Oncol 31 (22): 2810-8, 2013.23752112

## Factors That Influence End-of-Life Care Decisions and Outcomes

### Overview

One interpretation of the evidence, summarized in the Quality of End-of-Life Care in Patients With Advanced Cancer section, is that patients with advanced cancer too often receive burdensome and potentially harmful treatments without much chance of benefit and to the detriment of receiving purposeful end-of-life (EOL) care. Studies of patients with advanced cancer have identified factors that can influence EOL health care decisions and outcomes.

This section provides the oncology clinician with insights about potentially influential factors that may lead to more effective interactions with the patient in planning the transition to EOL care. Several notes of caution about the cited studies, however, are highlighted in the following:

1. The cross-sectional design of most studies prevents conclusions about causality. For example, studies that demonstrate a correlation between a patient’s optimistic predictions of prognosis and treatment decisions may be confounded by the tendency for the patient who chooses a specific treatment to be optimistic about the outcome, rather than the patient’s optimism being the primary reason for treatment.
2. Definitions of advanced cancer, median survival times of enrolled subjects, and study methodologies may all be relevantly different across studies, and uncontrolled or unrecognized confounders may skew reported correlations.
3. Many of the potentially relevant factors were treated as primary or secondary outcomes or as only one variable in multivariate analysis. Thus, the relationships among patient-oncologist communication, health care decision making near the EOL, and outcomes are not always firmly established. Nonetheless, the evidence from multiple sources demonstrates plausible and compelling links.
4. Factors unrelated to communication or decision making may influence the health care decisions of patients with advanced cancer near the EOL.

### Cited Studies

Three very large, comprehensive studies provide information for characterizing the relationships among markers of quality communication, decision making, health care decisions, and outcomes in patients with advanced cancer. These studies are described here, and results are integrated into subsequent sections.

- The Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatments (SUPPORT): This multisite (Ohio, North Carolina, Massachusetts, Wisconsin, and California) two-phase study evaluated an intervention to improve physician understanding of patient preferences, documentation and timing of do-not-resuscitate (DNR) orders, pain, time in intensive care, being comatose or receiving mechanical ventilation before death, and the use of hospital resources.[1] The first phase was a prospective descriptive study to confirm barriers and gaps in patient-physician communication; the second phase was a cluster randomized trial to test an intervention that targeted the identified barriers. A total of 4,301 patients were enrolled in phase I, and 4,804 were enrolled in phase II. The intervention focused on providing reliable information about prognosis, documenting patient and family preferences, and using a skilled nurse to educate patients and families and facilitate communication.
  Phase I of SUPPORT confirmed significant shortcomings in patient-physician communication.[2,3] Phase II demonstrated that the nurse-led intervention did not increase discussions about CPR preferences or concordance between patients and physicians about patients’ CPR preferences. It also did not decrease the number of days spent in the intensive care unit (ICU), frequency of mechanical ventilation, or level of pain.
- The Coping With Cancer (CwC) study: This prospective, longitudinal, multisite study of terminally ill cancer patients and their informal caregivers examined how psychosocial factors influence patient care and caregiver bereavement.[4] CwC enrolled 718 patients and their caregivers between September 2002 and August 2008. Key eligibility criteria included a diagnosis of advanced cancer (distant metastases and disease refractory to first-line chemotherapy) and presence of an informal caregiver. The median overall survival of enrolled patients was 4.5 months.
- The Cancer Care Outcomes Research and Surveillance (CanCORS) Consortium: This study enrolled more than 5,000 people diagnosed with lung or colorectal cancer between 2003 and 2005 who were identified within weeks of their diagnoses by a rapid-ascertainment method.[5,6] Patients lived in one of five geographic areas (Northern California; Los Angeles County, California; North Carolina; Iowa; or Alabama) or received care through a designated health maintenance organization or selected Veterans Health Administration hospital. Patients (or surrogates, if patients had died or were unavailable) were interviewed via computer-assisted surveys 4 to 7 months after diagnosis. The medical records of consenting adults were also abstracted.

### Patient Demographics

The goal of planning the transition to EOL care in a deliberate and thoughtful manner is to increase the likelihood that a person with advanced cancer will receive high-quality EOL care consistent with their informed preferences. A variety of patient characteristics influence the interaction with the oncology clinician and the patient’s decisions or outcomes. The following section highlights representative results of studies of patient demographics and other factors.

#### Age

Cancer is a disease of older adults.[7] It is important to remember, however, that there are probably differences in different cohorts of older adults.

- SUPPORT demonstrated a correlation between increasing age and a decreased desire for life-prolonging treatment. Older patients were less likely to receive aggressive treatments.[1]
- Seventy-three patients aged 70 to 89 years with metastatic colon cancer were interviewed about treatment decision making. Fewer than half (44%) of the patients wanted information about expected survival when they made decisions about treatment.[8]
- Older women are more likely than younger women to receive palliative care near the EOL. One study reported that 69.6% of women who died of metastatic breast cancer between 1992 and 1998 in the province of Quebec, Canada, did so in an acute-care hospital.[9] While most women (75%) had some indicators of a palliative care–oriented model (as extracted from information contained in two administrative databases), women younger than 50 years were less likely to receive palliative care than were women older than 70 years (odds ratio [OR], 1.85).
- One study analyzed the relationships among age, treatment preferences, and treatment received in a cohort of 396 deceased patients who were enrolled in CwC.[10] Patients older than 65 years and patients aged 45 to 64 years were less likely than younger patients to prefer and receive life-prolonging treatments. However, older patients who preferred life-prolonging therapies were less likely than younger patients to receive such treatments.

#### Gender

- In one study,[8] older men with metastatic colorectal cancer were more likely than women to desire prognostic information (56% vs. 29%; P < .05)
- Another study interviewed patients with advanced cancer before and after a visit with an oncology clinician to discuss scan results. Women were more likely than men to recognize the cancer as incurable and to accurately identify the stage of the cancer. Women were also more likely to report that discussions about life expectancy occurred.[11]

#### Race

- A secondary analysis of CwC demonstrated that Black patients were more likely than White patients to receive intensive treatments near the EOL. The frequency of high-intensity treatments near the EOL did not correlate with stated preferences and, unlike the case with White patients, EOL discussions did not decrease the likelihood of intensive treatments.[12] This effect of race persisted even if a DNR order was in place at the time of death.[13]
- Another study analyzed interviews with terminally ill White and African American patients to determine whether the patient-reported quality of relationships with physicians correlated with advance care planning (ACP) and preferences for life-sustaining treatment (LST).[14] African American patients reported lower-quality relationships, but these lower ratings did not explain the lower rates of ACP or higher rates of preferences for LST.
- Patients of African American or Asian descent are less likely to enroll in hospice and more likely to receive aggressive treatments, including hospitalizations and ICU admissions, than are White patients.[15-17]

#### Socioeconomic status

- Patients with Medicaid are less likely to receive hospice care than patients insured through Medicare. They are also more likely to be discharged to and die in acute-care facilities than at home with hospice.[18][Level of evidence: II];[19] Conversely, in a Medicaid population, Black patients are more likely than White patients to show evidence of EOL discussions.[20]
- Medicare beneficiaries enrolled in a managed care program were more likely to enroll in hospice and to enroll for longer periods of time.[21]

### Patient Understanding of Prognosis

Multiple studies have demonstrated correlations between patients’ understanding of their prognoses and health care decisions, medical outcomes, or psychological adjustment near the EOL. However, differences in study methodology, patient populations, measures of prognostic understanding, and the end point studied as the primary outcome preclude definitive conclusions about the relevance of the correlations. Furthermore, causality can only be inferred, given the cross-sectional nature of most studies. Nonetheless, a summary of the published data organized by the measure of prognostic understanding may provide insight into the decision-making processes of patients with advanced cancer.

- Patients often provide overly optimistic estimates of the likelihood of survival beyond 6 months. One group of researchers analyzed the prognostic understanding (measured as an estimate of surviving beyond 6 months) of 917 adults with metastatic colorectal or lung cancer who were enrolled in SUPPORT.[3] Patients who estimated a 90% or higher chance of surviving 6 months were more likely to prefer life-extending therapy and were more likely to experience a readmission, attempted cardiopulmonary resuscitation, or death while on a mechanical ventilator.
- A secondary analysis of a randomized controlled trial of palliative care interventions for 350 patients with metastatic, incurable lung cancer or noncolorectal gastrointestinal cancer looked at EOL outcomes and patient perception of prognosis. Patients were enrolled within 8 weeks of initial diagnosis and were asked at baseline and at weeks 12 and 24 after enrollment to report their self-perceived health status and to what extent they perceived their cancer as curable. The analysis found that 59% of the patients reported that their health status was “terminally ill” at the assessment falling closest to death, compared with 58% at baseline (59% remained or became accurate, while 41% remained or became inaccurate). A total of 66% of participants reported that their cancer was “likely curable” at the assessment that fell closest to death, compared with 71% at week 12 (35% remained or became accurate, and 65% remained or became inaccurate). The patients who classified their cancer as likely curable were less likely to enroll in hospice (OR, 0.25; P = .002) or die at home (OR, 0.56; P = .043), and they were more likely to be hospitalized in the last 30 days of life (OR, 2.28; P = .011).[22][Level of evidence: II]
- Patients frequently fail to correctly report the goal of anticancer treatment. One group of researchers reported that at baseline, 30.4% of a cohort of 181 patients with advanced cancer believed the treatment was curative; 20% reported they did not know.[23] Subjects who were not married, lived in rural areas, died within 6 months, or were receiving chemotherapy were more likely to report the goal of treatment as curative. At a 12-week assessment, fewer patients reported cure as a goal, but the difference was not significant. Another study found that providing patients who were starting second-line chemotherapy with specially designed written and audiovisual information discussing the palliative intention of their treatment did not improve patients’ accurate understanding of the goal of treatment.[24]
- Patients are often unaware of the terminal nature of the diagnosis of advanced cancer. However, patients who are aware of their terminal diagnosis have a higher quality of life (QOL) [25] and are more likely to receive care consistent with their preferences.[26,27]

### Patient Preferences

Respect for patient preferences is essential to high-quality cancer care and to protecting patient autonomy. Patients with advanced cancer who had an opportunity to discuss their EOL preferences were more likely to receive care consistent with their wishes.[26]

As it stands, evidence suggests that oncology clinicians often do not elicit or clarify patient preferences and, ultimately, fail to provide care consistent with their preferences. For example, a 2011 study [28] of 128 patients with newly diagnosed advanced-stage lung cancer found that:

- 88.2% wanted to be informed about life expectancy (52.7% said they were informed).
- 63.5% wanted to be informed about palliative care (25% said they were informed).
- 56.8% wanted to be informed about EOL decisions (31% said they were informed).
- None of the patients recalled being asked about their information preferences.

The final observation highlights the fundamental question of how oncology clinicians should elicit patient preferences. While direct questioning may seem to be the most straightforward approach, a study of two single-item preference measures demonstrated that the decision-making preferences of patients appear to differ on the basis of what measure was utilized.[29]

Although the optimal way to elicit patient preferences is uncertain, a few studies have shed light on this topic. Patients with advanced cancer have several preferences of potential significance to planning the transition to EOL care, including:

- Timing and manner of prognostic information disclosure.
- Decision-making role.
- Palliative chemotherapy rather than palliative care without chemotherapy.
- QOL or length of life.

A discussion about preferences is complicated. Preferences may be narrowly construed or may reflect the fundamental values of an individual. In a study of 337 older patients’ attitudes about using advance directives to manage EOL care,[30] 85% of respondents believed it was definitely (55%) or somewhat (30%) necessary to record their wishes in advance directives. However, most (80%) preferred either general value and goal statements or both precise and general directions. There was a strong preference for discussion among surrogate decision makers on behalf of the incapacitated person.[30]

In a 2020 survey study at Johns Hopkins Hospital, investigators interviewed 200 surgical and medical oncology inpatients about their preferences for discussions about advance directives, which their survey defined as “a document or paper that tells your care providers about the kind of medical treatment you would want if you were very sick and could not make those decisions for yourself.”[31] They found that:

- 43.5% of patients preferred to have advance care planning discussions with their primary care providers, compared with 7% with their surgeons and 5.5% with their medical oncologists. Patients cited their longitudinal relationships with their primary care providers and these providers’ “strong interpersonal skills” as explanations for this preference.
- Patients generally preferred such discussions to occur early in the disease course. A total of 48.5% said they felt the optimal timing was before a cancer diagnosis, and 32% said it was at the time of diagnosis.
- 82.5% of patients thought discussions about advance directives should be initiated by the physician rather than the patient.

#### Preference for information about prognosis

Patients with life-limiting illnesses desire information about prognosis,[32] believe that such information may be provided without compromising hope,[33] and prefer that oncologists inquire about their preferences for such information.[34] Younger patient age, female sex, and a shorter life expectancy as perceived by the patient correlate with increased information needs.[8]

#### Preference for decision-making role

A variety of measures assess patients’ preferences for a decision-making role. The Control Preference Scale [35] asks patients to select one of five statements that best reflects their approaches; results are coded active (“I prefer to make the final selection”), collaborative (“I prefer that my doctor and I share responsibility”), or passive (“I prefer that my doctor makes the final decision”). The available information suggests that preferences vary widely. It is unclear to what extent this variation in preferences is due to differences in disease, different types of patients, or methodological differences.

- Patients aged 70 to 89 years with metastatic colorectal cancer were interviewed about their preferred role in decision making.[8] Fifty-two percent preferred a passive role. Preference for a passive role was more common among patients who were older or female or had a poorer performance status or newly diagnosed metastatic disease.
- In a separate study, a similar proportion (47%) of women aged 31 to 83 years with metastatic breast cancer reported taking a passive role in decision making about palliative chemotherapy. Women who were facing a decision about second-line chemotherapy reported a slightly higher rate of active participation (43% vs. 33%; P = .06).[36]
- In another study, 63% of patients with advanced cancer in a palliative care clinic preferred an active role in decision making.[37]

#### Preference for palliative chemotherapy

Several studies have demonstrated that most patients prefer chemotherapy before consultation with a medical oncologist.[38] For example, a group of Dutch researchers assessed the decision-making process of 140 patients with metastatic cancer for whom palliative chemotherapy or best supportive care were reasonable options.[39] Before the consultation, 68% of patients expressed a preference for chemotherapy. Seventy-eight percent of patients eventually chose chemotherapy. The only patient characteristic associated with preference for treatment was younger age. The strongest predictor of treatment choice was the preconsultation preference.

The preference for chemotherapy may relate in part to the observations that patients are not fully informed, or they reject the information or reinterpret it to fit their perspectives. In addition, patients may value survival more and QOL less than oncology clinicians anticipate.[40]

#### Preference for QOL or length of life

As discussed in the Patient Preferences section, patient preferences may be narrowly or broadly construed. Preferences that are foundational to more specific preferences might be better considered as patient values.[41] In addition to the preference being measured, the methods of measuring preferences vary significantly. The interested reader may consult a 2012 review [42] for a discussion of the different instruments. Notable observations include the following:

- Multivariate analysis of one study [43] demonstrated that advanced cancer patients’ preferences for chemotherapy were explained by higher values assigned to length of life and lower values for QOL. The last variable was measured by the Quality-Quantity Questionnaire (QQQ), which categorizes patients as favoring QOL or length of life or having no preference.[44] The patients’ preconsultation preferences were most strongly explained by striving for length of life rather than QOL. Given the lack of demonstrable survival benefit of chemotherapy in advanced cancer, the authors speculated that patients may not receive accurate information in the consultation that clearly delineates the goal of chemotherapy.
- Another study [45] interviewed 125 outpatients with cancer (all stages) about their attitudes toward treatment. Patients also completed the QQQ. The investigators found that patients who were older, tired, or more negative valued QOL more than others. Patients who were within 6 months of diagnosis rated length of life as more important. It should be noted, however, that patients did not rank the importance of length relative to quality in this study. There was a correlation between striving for QOL and appreciation for ACP.
- A third study enrolled only patients with advanced cancer (459 respondents) and asked them to rate the relative value of QOL or length of life.[46] Fifty-five percent valued QOL and length of life equally; 27% preferred QOL; and 18% preferred length of life. A preference for QOL correlated with older age, male gender, and increased levels of education. Patients with a preference for length of life also preferred less pessimistic communication from oncologists.

### Patient Goals of Care

Discussions about goals of care with advanced-cancer patients are considered to be a critical component of planning the transition to EOL care. However, the definitions of goals of care vary significantly in the relevant literature. Before discussing observations related to goals of care with patients with advanced cancer (and other life-limiting illnesses), it is important to consider whether to distinguish goals of treatment from goals of care.

- Some investigators have used the phrase goals of care to identify the goals of disease-directed treatments. Perhaps it would be clearer if such goals were labeled goals of treatment.
- Viewed another way, goals of care are distinct from goals related to treatment of disease with remittive or curative intent; these goals reflect the interests of patients and families after they have accepted that disease-directed treatments will not accomplish their intended goals, and they seek “the profound human needs for meaning, comfort, and direction.”[47] From that perspective, goals of care are similar to the attributes that define a good death, as discussed earlier.

Another perspective is that there is a continuum of goals and that the purpose of conversations about goals of care is to help patients identify alternatives for achieving their goals. A structured literature review and a qualitative analysis of palliative care consultations about goals of care support this perspective, as summarized below:

- One study analyzed relevant publications to establish a categorization of goals of care for patients with life-limiting illnesses.[47] The authors proposed six comprehensive goals: be cured; live longer; improve or maintain function, QOL, and independence; be comfortable; achieve life goals; and provide support for family or caregiver.
- Another study reported a qualitative analysis of prognostic communication in palliative care consultations.[48] The investigators noted that palliative care physicians used a tactic of excluding certain goals of care to encourage patients to think about alternative goals. This tactic suggests that treatment-related goals are often replaced by more personal goals once disease-directed treatment is not advisable.

At present, there are no data on the positive or negative influence of discussions about goals of care on EOL outcomes of patients with advanced cancer.

### Religious and Spiritual Beliefs and Values of Patients

Patient religiosity and the provision of spiritual care consistent with a patient’s preference have been correlated with EOL outcomes. A series of reports from CwC [49-51] found that approximately half of patients with serious or life-threatening illnesses indicated that religious or spiritual beliefs were important to them, as measured by higher scores on the Positive Religious Coping Scales subscale of the RCOPE, a measure of religious coping.[52] RCOPE scores were significantly higher among African American and Hispanic patients.

In analyses adjusted for demographic differences, higher levels of positive religious coping were significantly related to the receipt of mechanical ventilation, compared with low levels of religious coping (11.3% vs. 3.6%) and intensive life-prolonging care during the last week of life (13.6% vs. 4.2%).[49] The degree to which the care facility addressed religious and spiritual concerns may substantially affect this relationship. Patients who reported that their spiritual needs were substantially supported by the medical team (26.3%) were significantly more likely to receive hospice care and less likely to receive aggressive care; they also reported higher QOL. Pastoral care, received by about 46% of patients, did not affect receipt of such services, but did affect QOL just before death.[50]

### Patient-Oncologist EOL Discussions

#### Recall of EOL discussions

Recall of EOL discussions influences the EOL health care decisions and outcomes of patients with advanced cancer. A total of 123 of 332 patients (37%) enrolled in CwC answered affirmatively when asked, "Have you and your doctors discussed any particular wishes you have about the care you would want to receive if you were dying?”[4] Recall of EOL discussions was associated with lower rates of mechanical ventilation, resuscitation, or ICU admission and earlier referral to hospice.

A subsequent analysis reported on the treatment preferences of 325 patients who died while enrolled in CwC.[26] Seventy-two percent of patients with advanced cancer preferred treatment focused on comfort, answering affirmatively to the question, “If you could choose, would you prefer a plan of care that focused on relieving pain and discomfort, even if this meant not living as long?”; 28% preferred life-extending treatment. Sixty-eight percent received EOL care consistent with baseline preferences. The likelihood of receiving care consistent with preferences was increased if the patient reported an EOL discussion with a physician (OR, 2.26; P < .0001) or was aware of being terminally ill (OR, 3.94; P = .0005).

### The Nature of the Decision

#### Decision to receive cancer-directed therapy

Patients with advanced cancer frequently receive multiple regimens of chemotherapy over the course of their treatment. Whether the decision involves first-line or second-line treatment for advanced disease may influence the decision-making process. One group of investigators conducted 117 semistructured interviews of 102 women with advanced breast cancer who were receiving first-line (n = 70) or second-line (n = 47) palliative chemotherapy.[36] Women in the second-line cohort were more likely than women in the first-line cohort to explain their decision to undergo chemotherapy because of the hope that it offered (43% vs. 19%; P = .006) and to report taking an active role in the decision process. Another research group demonstrated that physicians exerted greater control over decisions when evidence for or against a treatment was less certain or if the cancer was advanced.[53] Thus, the patient’s rationale for treatment and the relevance of the oncologist’s perspective change with the nature of the decision.

#### Decision to limit treatment

Most deaths resulting from advanced cancer are preceded by decisions to limit treatment. Given the prevalence, importance, and challenges of these decisions, however, there is relatively little information about how patient preferences are considered during decision making.

Using researchers embedded in health care teams, one group of investigators characterized the deliberations about limiting potentially life-prolonging treatments for 76 hospitalized patients with incurable cancer.[54] Two-thirds of the patients preferred comfort care, and one-third desired life-prolonging therapy. Patient preferences for comfort were more often in line with oncologists' preferences than were patient preferences for life-prolongation (91.4% vs. 46.7%; P = .001). Patients were involved in decisions to limit treatment only half of the time. Age, performance status, or decisional capacity did not influence the rate of patient involvement; agreement with oncologist preferences was the main predictor. Thus, decisions to limit treatment may reflect a shared perception rather than a shared decision-making process.

### References

A controlled trial to improve care for seriously ill hospitalized patients. The study to understand prognoses and preferences for outcomes and risks of treatments (SUPPORT). The SUPPORT Principal Investigators. JAMA 274 (20): 1591-8, 1995 Nov 22-29.7474243
Haidet P, Hamel MB, Davis RB, et al.: Outcomes, preferences for resuscitation, and physician-patient communication among patients with metastatic colorectal cancer. SUPPORT Investigators. Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatments. Am J Med 105 (3): 222-9, 1998.9753025
Weeks JC, Cook EF, O'Day SJ, et al.: Relationship between cancer patients' predictions of prognosis and their treatment preferences. JAMA 279 (21): 1709-14, 1998.9624023
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Chen AB, Cronin A, Weeks JC, et al.: Palliative radiation therapy practice in patients with metastatic non-small-cell lung cancer: a Cancer Care Outcomes Research and Surveillance Consortium (CanCORS) Study. J Clin Oncol 31 (5): 558-64, 2013.23295799
Ayanian JZ, Chrischilles EA, Fletcher RH, et al.: Understanding cancer treatment and outcomes: the Cancer Care Outcomes Research and Surveillance Consortium. J Clin Oncol 22 (15): 2992-6, 2004.15284250
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Elkin EB, Kim SH, Casper ES, et al.: Desire for information and involvement in treatment decisions: elderly cancer patients' preferences and their physicians' perceptions. J Clin Oncol 25 (33): 5275-80, 2007.18024875
Gagnon B, Mayo NE, Hanley J, et al.: Pattern of care at the end of life: does age make a difference in what happens to women with breast cancer? J Clin Oncol 22 (17): 3458-65, 2004.15277537
Parr JD, Zhang B, Nilsson ME, et al.: The influence of age on the likelihood of receiving end-of-life care consistent with patient treatment preferences. J Palliat Med 13 (6): 719-26, 2010.20597704
Fletcher K, Prigerson HG, Paulk E, et al.: Gender differences in the evolution of illness understanding among patients with advanced cancer. J Support Oncol 11 (3): 126-32, 2013.24400392
Loggers ET, Maciejewski PK, Paulk E, et al.: Racial differences in predictors of intensive end-of-life care in patients with advanced cancer. J Clin Oncol 27 (33): 5559-64, 2009.19805675
Mack JW, Paulk ME, Viswanath K, et al.: Racial disparities in the outcomes of communication on medical care received near death. Arch Intern Med 170 (17): 1533-40, 2010.20876403
Smith AK, Davis RB, Krakauer EL: Differences in the quality of the patient-physician relationship among terminally ill African-American and white patients: impact on advance care planning and treatment preferences. J Gen Intern Med 22 (11): 1579-82, 2007.17879120
Smith AK, Earle CC, McCarthy EP: Racial and ethnic differences in end-of-life care in fee-for-service Medicare beneficiaries with advanced cancer. J Am Geriatr Soc 57 (1): 153-8, 2009.19054185
Haas JS, Earle CC, Orav JE, et al.: Lower use of hospice by cancer patients who live in minority versus white areas. J Gen Intern Med 22 (3): 396-9, 2007.17356975
Mullins MA, Ruterbusch JJ, Clarke P, et al.: Trends and racial disparities in aggressive end-of-life care for a national sample of women with ovarian cancer. Cancer 127 (13): 2229-2237, 2021.33631053
Singh S, Molina E, Perraillon M, et al.: Post-Acute Care Outcomes of Cancer Patients <65 Reveal Disparities in Care Near the End of Life. J Palliat Med 26 (8): 1081-1089, 2023.36856522
Mack JW, Chen K, Boscoe FP, et al.: Underuse of hospice care by Medicaid-insured patients with stage IV lung cancer in New York and California. J Clin Oncol 31 (20): 2569-79, 2013.23733768
Sharma RK, Dy SM: Documentation of information and care planning for patients with advanced cancer: associations with patient characteristics and utilization of hospital care. Am J Hosp Palliat Care 28 (8): 543-9, 2011.21454317
McCarthy EP, Burns RB, Ngo-Metzger Q, et al.: Hospice use among Medicare managed care and fee-for-service patients dying with cancer. JAMA 289 (17): 2238-45, 2003.12734135
Gray TF, Plotke R, Heuer L, et al.: Perceptions of prognosis and end-of-life care outcomes in patients with advanced lung and gastrointestinal cancer. Palliat Med 37 (5): 740-748, 2023.36802979
Craft PS, Burns CM, Smith WT, et al.: Knowledge of treatment intent among patients with advanced cancer: a longitudinal study. Eur J Cancer Care (Engl) 14 (5): 417-25, 2005.16274462
Enzinger AC, Uno H, McCleary N, et al.: Effectiveness of a Multimedia Educational Intervention to Improve Understanding of the Risks and Benefits of Palliative Chemotherapy in Patients With Advanced Cancer: A Randomized Clinical Trial. JAMA Oncol 6 (8): 1265-1270, 2020.32672806
Yun YH, Kwon YC, Lee MK, et al.: Experiences and attitudes of patients with terminal cancer and their family caregivers toward the disclosure of terminal illness. J Clin Oncol 28 (11): 1950-7, 2010.20212258
Mack JW, Weeks JC, Wright AA, et al.: End-of-life discussions, goal attainment, and distress at the end of life: predictors and outcomes of receipt of care consistent with preferences. J Clin Oncol 28 (7): 1203-8, 2010.20124172
Loh KP, Seplaki CL, Sanapala C, et al.: Association of Prognostic Understanding With Health Care Use Among Older Adults With Advanced Cancer: A Secondary Analysis of a Cluster Randomized Clinical Trial. JAMA Netw Open 5 (2): e220018, 2022.35179585
Pardon K, Deschepper R, Vander Stichele R, et al.: Are patients' preferences for information and participation in medical decision-making being met? Interview study with lung cancer patients. Palliat Med 25 (1): 62-70, 2011.20621948
Gattellari M, Ward JE: Measuring men's preferences for involvement in medical care: getting the question right. J Eval Clin Pract 11 (3): 237-46, 2005.15869554
Hawkins NA, Ditto PH, Danks JH, et al.: Micromanaging death: process preferences, values, and goals in end-of-life medical decision making. Gerontologist 45 (1): 107-17, 2005.15695421
Kubi B, Istl AC, Lee KT, et al.: Advance Care Planning in Cancer: Patient Preferences for Personnel and Timing. JCO Oncol Pract 16 (9): e875-e883, 2020.32282265
Fried TR, Bradley EH, O'Leary J: Prognosis communication in serious illness: perceptions of older patients, caregivers, and clinicians. J Am Geriatr Soc 51 (10): 1398-403, 2003.14511159
Hagerty RG, Butow PN, Ellis PM, et al.: Communicating with realism and hope: incurable cancer patients' views on the disclosure of prognosis. J Clin Oncol 23 (6): 1278-88, 2005.15718326
Hagerty RG, Butow PN, Ellis PM, et al.: Communicating prognosis in cancer care: a systematic review of the literature. Ann Oncol 16 (7): 1005-53, 2005.15939716
Degner LF, Sloan JA: Decision making during serious illness: what role do patients really want to play? J Clin Epidemiol 45 (9): 941-50, 1992.1432023
Grunfeld EA, Maher EJ, Browne S, et al.: Advanced breast cancer patients' perceptions of decision making for palliative chemotherapy. J Clin Oncol 24 (7): 1090-8, 2006.16505428
Bruera E, Sweeney C, Calder K, et al.: Patient preferences versus physician perceptions of treatment decisions in cancer care. J Clin Oncol 19 (11): 2883-5, 2001.11387361
Kiely BE, Stockler MR, Tattersall MH: Thinking and talking about life expectancy in incurable cancer. Semin Oncol 38 (3): 380-5, 2011.21600367
Koedoot CG, de Haan RJ, Stiggelbout AM, et al.: Palliative chemotherapy or best supportive care? A prospective study explaining patients' treatment preference and choice. Br J Cancer 89 (12): 2219-26, 2003.14676798
Harrington SE, Smith TJ: The role of chemotherapy at the end of life: "when is enough, enough?". JAMA 299 (22): 2667-78, 2008.18544726
Epstein RM, Peters E: Beyond information: exploring patients' preferences. JAMA 302 (2): 195-7, 2009.19584351
Blinman P, King M, Norman R, et al.: Preferences for cancer treatments: an overview of methods and applications in oncology. Ann Oncol 23 (5): 1104-10, 2012.22234737
Koedoot CG, Oort FJ, de Haan RJ, et al.: The content and amount of information given by medical oncologists when telling patients with advanced cancer what their treatment options are. palliative chemotherapy and watchful-waiting. Eur J Cancer 40 (2): 225-35, 2004.14728937
Stiggelbout AM, de Haes JC, Kiebert GM, et al.: Tradeoffs between quality and quantity of life: development of the QQ Questionnaire for Cancer Patient Attitudes. Med Decis Making 16 (2): 184-92, 1996 Apr-Jun.8778537
Voogt E, van der Heide A, Rietjens JA, et al.: Attitudes of patients with incurable cancer toward medical treatment in the last phase of life. J Clin Oncol 23 (9): 2012-9, 2005.15774792
Meropol NJ, Egleston BL, Buzaglo JS, et al.: Cancer patient preferences for quality and length of life. Cancer 113 (12): 3459-66, 2008.18988231
Kaldjian LC, Curtis AE, Shinkunas LA, et al.: Goals of care toward the end of life: a structured literature review. Am J Hosp Palliat Care 25 (6): 501-11, 2008 Dec-2009 Jan.19106284
Norton SA, Metzger M, DeLuca J, et al.: Palliative care communication: linking patients' prognoses, values, and goals of care. Res Nurs Health 36 (6): 582-90, 2013.24114740
Phelps AC, Maciejewski PK, Nilsson M, et al.: Religious coping and use of intensive life-prolonging care near death in patients with advanced cancer. JAMA 301 (11): 1140-7, 2009.19293414
Balboni TA, Paulk ME, Balboni MJ, et al.: Provision of spiritual care to patients with advanced cancer: associations with medical care and quality of life near death. J Clin Oncol 28 (3): 445-52, 2010.20008625
Maciejewski PK, Phelps AC, Kacel EL, et al.: Religious coping and behavioral disengagement: opposing influences on advance care planning and receipt of intensive care near death. Psychooncology 21 (7): 714-23, 2012.21449037
Pargament KI, Smith BW, Koenig HG, et al.: Patterns of positive and negative religious coping with major life stressors. J Sci Study Relig 37 (4): 710-24, 1998.
Keating NL, Beth Landrum M, Arora NK, et al.: Cancer patients' roles in treatment decisions: do characteristics of the decision influence roles? J Clin Oncol 28 (28): 4364-70, 2010.20713872
Winkler EC, Reiter-Theil S, Lange-Riess D, et al.: Patient involvement in decisions to limit treatment: the crucial role of agreement between physician and patient. J Clin Oncol 27 (13): 2225-30, 2009.19307508

## Potential Barriers to Planning the Transition to End-of-Life Care

The preferences of patients with advanced cancer should, in large part, determine the care they receive. However, evidence suggests that patients lack sufficient opportunity to develop informed preferences and, as a result, may seek care that is potentially inconsistent with their personal values and goals. For more information, see the Factors That Influence End-of-Life Care Decisions and Outcomes section.

This section identifies potential barriers that may prevent a patient with advanced cancer and his or her oncologist from discussing prognosis, goals, options, and preferences.[1] The information will allow the oncology clinician to develop the strategies needed to approach these challenging discussions more deliberately.

Potential barriers include the following:

- Patients’ interpretations of prognostic information.
- Lack of agreement between patients and oncologists.
- Oncologists’ communication behaviors.
- Oncologists’ misconceptions about the harm of end-of-life (EOL) discussions.
- Oncologists’ attitudes and preferences.
- Reimbursement for chemotherapy and practice economics.
- Uncertainty about options other than disease-directed treatments.

### Patients’ Interpretations of Prognostic Information

A consistent finding over the last two decades is that patients with advanced cancer are typically overly optimistic about their life expectancies or the potential for cure with cancer-directed therapies.

- In a study of 1,193 patients in the Cancer Care Outcomes Research and Surveillance (CanCORS) Consortium, a significant majority of patients with advanced lung or colorectal cancer did not understand that treatment was not curative. Sixty-nine percent of patients did not understand that chemotherapy was unlikely to cure their cancers.[2] Patients who were not White, were diagnosed with colorectal cancer, or reported satisfaction with physician communication were more likely to report inaccurate understanding of treatment intent.
- Similarly, 64% of patients with incurable lung cancer who received radiation therapy did not understand that it was not likely to cure their cancers. Older and non-White patients were more likely to misunderstand; surrogates of patients were more likely to understand.[3]

There are many potential barriers to a more accurate understanding of prognosis, including poor communication by oncology clinicians. However, patients also interpret information for reasons unrelated to the quality of communication. The perspectives of patients with advanced cancer who enroll in phase I clinical trials or surrogate decision makers for patients in intensive care units (ICUs) provide some insights into why advanced cancer patients might misinterpret prognostic information.

- Patients’ optimistic expectations of benefit from phase I trials were associated with a better quality of life, stronger religious faith, optimism, poorer numeracy (ability to understand a statistical estimate of treatment outcome), and monetary risk seeking. They were unrelated to age, gender, educational level, or functional status.[4]
- In a study of 163 patients enrolled in a phase I trial, most were aware of hospice (81%) or palliative care (84%), but few considered either choice seriously (hospice, 10%; palliative care, 7%). Seventy-five percent of patients reported the most important influence was awareness that their cancer was growing; 63% of them stated the knowledge that the phase I drug killed cancer cells was the most important factor in their decision to enroll.[5]
- In a study of 80 surrogate decision makers recruited from the families of ICU patients, most were fairly accurate in their interpretations of quantitative information and less ambiguous qualitative estimates by ICU physicians. However, several potentially relevant sources of prognostic misunderstanding included the need to express optimism, the belief that the patients’ fortitude would lead to better-than-predicted outcomes, and a disbelief that physicians can predict accurately.[6]

### Lack of Agreement Between Patients and Oncologists

Multiple conversations between patients with advanced cancer and their oncologists should lead to an understanding about prognoses, goals, preferences, options, and the decision-making process. However, evidence suggests that patients and oncologists frequently do not reach the same conclusions about these issues. How this lack of agreement affects the transition to EOL care is not certain. However, disagreement with or misperceptions about goals of treatment, for example, are unlikely to contribute positively to the timely planning for the transition to EOL care.

#### Understanding of prognosis

One group of investigators analyzed the prognostic estimates of 917 adults with metastatic colorectal or lung cancer who were enrolled in the Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatments (SUPPORT) and their physicians.[7] There were three notable findings:

- Patients were more optimistic than physicians.
- Physician estimates were more calibrated with the observed survival than were patient estimates.
- Patients who were more optimistic than their oncologists were more likely to prefer life-extending treatments.

The poor concordance between patients and oncology clinicians has been observed in a diverse range of patients, including patients with acute myeloid leukemia [8] or those considering allogeneic stem cell transplantation.[9] For more information, see the Patients' Interpretations of Prognostic Information section.

Discordance about life expectancy between patients with advanced cancer and their oncologists may be explained by poor communication or factors independent of oncologists’ prognostic estimates. One group of researchers attempted to clarify the source of prognostic discordance by surveying 236 patients with advanced cancer who participated in a randomized clinical trial of a communication intervention.[10] The patients and their 38 oncologists were asked to provide an estimate of the chance that the patients would be alive in 2 years. The responses were fixed choices of 100%, about 90%, about 75%, about 50%, about 25%, about 10%, and 0%. Discordance was defined as being more than one response category divergent.

As expected, most patient-oncologist dyads were discordant (161 of 236 ratings [68%]; 95% confidence interval [CI], 62%–75%). Almost all discordant patients expressed a more-optimistic prognosis than their oncologists (155 of 161 patients [96%]).[10] The investigators also asked patients to provide the estimate they believed their oncologists would provide. The response categories and definition of discordance were identical. Of the 161 patients who were discordant with their oncologists, 144 (89%) were unaware of the discrepancy. Non-White patients were more likely to provide discordant prognostic expectations. Patient income, education level, sex, or level of recalled prognostic communication did not correlate with discordance. These results support the belief that prognostic discordance reflects inadequate communication of prognostic estimates. However, patients’ expressions of life expectancy may also reflect the need for optimism or the belief in unique personal characteristics.[6]

#### Goals of treatment

Patients and oncologists frequently do not share an understanding of the goals of cancer treatment. One group of researchers reported that in 25% of the advanced-cancer patient–physician dyads surveyed, the patient thought the goal of care was to cure disease when it was not.[11] Younger patients, patients who were native English speakers, and patients who received written information were more likely to agree with their oncologists about the intent of chemotherapy. Another group of researchers reported that 64% of patients with advanced-stage lung cancer did not understand that the radiation therapy prescribed was not curative.[3]

A study of 206 cancer patients and their 11 oncologists sought to identify how well the oncologists understood their patients’ goals of care, defined as preference for quality of life versus preference for length of life.[12] The investigators interviewed the oncologists and patients at baseline and every 3 months for 15 months (or until the patient died or enrolled in hospice). The participants were shown a 100-point visual analogue scale with “quality of life is all that matters” at one end of the scale (scored as 0) and “length of life is all that matters” at the other end of the scale (scored as 100). Patients and their oncologists were asked to rate their answers on the scale in response to one of the two questions, “Regarding your care, what is most important to you right now?” (patients) and “Regarding the care of this patient, what do you think is most important to the patient right now?” (oncologists). Participants who scored between 0 and 30 were classified as having a high goal for comfort, while those who scored between 70 and 100 were deemed to have a high goal for survival. The patient-oncologist dyad was considered to be closely aligned if they both scored within the same 30-point windows for a high goal of either comfort (scored 0–30) or survival (scored 70–100). However, at the last interview prior to the patient's death, 76.7% of the patient-oncologist dyads were not in close alignment.[12]

#### Topics recalled from consultation

Researchers reported that patients and oncologists frequently recalled different components of communication and decision making from discussions of phase I trials.[13] For example, 13 of 17 participating oncologists mentioned prognosis in fewer than 50% of consultations. Although oncologists frequently reported discussing prognosis, only 12% of patients and 20% of independent researchers who coded the recorded consultations agreed. There was better agreement about unknown adverse events and the voluntary nature of trial enrollment.

#### Patient preference for decision-making role

Oncology clinicians frequently do not correctly identify patient preferences for decision-making roles. Results from a few Illustrative studies are summarized below.

- In a study of older patients with metastatic colorectal cancer, 52% preferred a passive role. However, oncologists correctly identified patient preferences only 41% of the time.[14]
- Palliative care physicians correctly identified the decision-making preference of patients with advanced cancer in a palliative care clinic only 38% of the time.[15]

#### Assessment of patient performance status

Physicians evaluate patient performance status (PS) in determining prognosis and in making treatment decisions. Investigators compared the Eastern Cooperative Oncology Group PS reported by physicians and 1,636 patients who had advanced lung or colorectal cancers.[16] They demonstrated 56.6% disagreement between patients and physicians about PS; more optimism by physicians about PS (mean, 0.91 vs. 1.30); and association of disagreement with an increased risk of death.

#### Patient preference for cardiopulmonary resuscitation

The initial phase of SUPPORT demonstrated that only 47% of physicians knew when their patients wanted to avoid cardiopulmonary resuscitation (CPR).[17] In a subsequent analysis, researchers studied 520 patients with metastatic colorectal cancer.[18] Information about CPR preferences for 339 of the patients was available: 223 (63%) wanted CPR; however, physicians incorrectly identified patient preference in 30% of cases. The preference for CPR was stronger among patients who had a more optimistic sense of the likelihood of survival at 2 months. Other investigators found similar results in a group of patients with lung disease.[19] Physicians frequently misunderstood patients’ preferences (25%–40% of dyads). The lack of agreement was greater if patients wished to avoid resuscitation. Neither study reported the effect of the disagreement on patient outcomes.

### Oncologist Communication Behaviors

This section summarizes the evidence that identifies deficits in the communication behaviors of oncologists treating patients who have advanced cancer. This evidence strongly suggests that doctor-patient communication frequently does not fully support informed or shared decision making. This information will allow oncology clinicians to reflect on their communication habits and consider modifying impediments to the timely planning for the transition to EOL care.

#### Observational studies of patient-oncologist communication

Investigators reported a study of audiotaped consultations between one of nine oncologists and each of 118 patients with advanced cancer.[20] They devised a coding system to assess how frequently essential information (e.g., aim of treatment, incurability of cancer, risks of treatment, information about life expectancy, and alternative treatment options) was disclosed and how much the doctor facilitated the patient’s participation in making decisions. A summary of results follows, with independent observations cited as appropriate:

- Most oncologists disclosed the noncurative intent of chemotherapy in advanced cancer, but few discussed alternatives to chemotherapy. In 74.6% of encounters, patients were told the cancer was incurable. However, patients were presented with information about life expectancy in only 57.6% of encounters and were given information about treatment alternatives in only 44.6% of encounters.
- Oncologists rarely checked patient understanding, asking about patient understanding of the disclosed information and decision-making process in only 10% of encounters.
- Essential elements of shared decision making were frequently missing. The participating oncologists frequently acknowledged the uncertainty of treatment benefit (72.9%), discussed trade-offs in receiving treatment (60.2%), and elicited patient perspectives about treatment (69.5%). However, only 29.7% of patients were offered a choice, and in only 10.2% of the encounters did the oncologist assess the patient’s comprehension.

Additional deficits in oncologist communication behaviors include the following:

- Oncologists frequently use ambiguous or falsely reassuring language, such as inappropriately optimistic statements. One group of researchers analyzed audiotapes of encounters between oncologists and patients in which the oncologists had provided a likelihood of cure using current treatments.[21] The audiotapes were selected according to the degree of prognostic agreement and then coded to determine factors that predict agreement. Oncologists were more likely to make optimistic statements, but pessimistic statements were more likely to increase the degree of prognostic agreement. The authors concluded that the best communication strategy may include acknowledging that the tendency to be optimistic may interfere with patient understanding of prognosis and striving to provide honest information as warranted by the prognosis.
- Oncologists frequently do not discuss the anticipated survival benefit of chemotherapy in advanced cancer. One group of investigators demonstrated that in 26 of 37 analyzed consultations, the oncologist did not provide the patient with information about the potential survival gain of palliative (i.e., noncurative) chemotherapy.[22]

#### Oncologist self-reported practices in prognostic communication

There is evidence that physicians’ attitudes toward prognostic communication influence patients’ prognostic awareness. In an analysis of physician surveys from the Cancer Care Outcomes Research and Surveillance (CanCORS) Consortium,[23] investigators reported that patients with metastatic lung or colorectal cancer were more likely to have an accurate prognostic awareness if their most important doctor reported discussing prognosis earlier rather than waiting for deterioration (18.5% vs. 7.6%; odds ratio, 3.23; 95% confidence interval, 1.39–7.52; P = .006). Thus, understanding the factors that influence oncologists’ attitudes is relevant to improving prognostic communication. Two additional surveys of American oncologists and communication about prognosis have been published. One study analyzed the survey responses of 729 oncologists (64% response rate).[24] Almost all (98%) indicated they would disclose a terminal prognosis, but 48% indicated they would do so only when the patient’s preference for disclosure of prognosis was known. Fewer than half (43%) of the oncologists always provided an estimate of time until death. Three-quarters of them indicated they had not received formal training in communication of terminal prognoses; 96% thought training should be mandatory.

Another study reported that 65% of physicians surveyed discussed prognosis immediately with asymptomatic patients who had advanced cancer and anticipated life expectancies of 4 to 6 months.[25] However, fewer physicians would immediately discuss resuscitation preference (44%), hospice (26%), or preferred site of death (21%), with most physicians waiting for patient symptoms to appear or until there were no more treatments to offer. Younger physicians, surgeons, and oncologists were more likely than noncancer specialists to discuss prognosis.

### Oncologists' Misconceptions About the Harm of EOL Discussions

Oncologists cite several reasons for their reluctance to engage in EOL discussions. However, several studies have provided evidence that many of the concerns—e.g., causing psychological harm or destroying hope—are not valid.[26][Level of evidence: II] On the contrary, EOL conversations are not psychologically harmful and may improve psychological adjustment, while explicit information about prognosis does not necessarily compromise a patient’s sense of hope.

- A multisite, prospective, longitudinal cohort study reported that discussions about EOL care were not psychologically harmful. Patients with advanced cancer who answered affirmatively to the question, "Have you and your doctors discussed any particular wishes you have about the care you would want to receive if you were dying?" did not have a higher rate of generalized anxiety disorder or major depressive disorder than did patients who did not recall such discussions (3.3% vs. 1.4% and 8.3% vs. 5.8%, respectively).[27] In addition, recall of such discussions was not related to levels of worry.
- Another study found that patient anxiety caused by disclosure of information and decision making was transient or may have improved psychological adjustment. The amount of information disclosed by oncologists did not predict levels of patient anxiety.[20] However, greater encouragement of the patient to participate in decision making was independently associated with higher anxiety levels immediately after the consultation and 2 weeks later.
  In another study, men with advanced cancer who estimated a lower likelihood of survival at 6 months had increased levels of anxiety and depression.[28] However, men who reported having a full discussion about prognosis with their oncologist had less depression and similar levels of anxiety. Thus, discussions about prognosis moderated the relationships with anxiety and depression and may have facilitated long-term psychological adjustment.
- A study found that explicit disclosure about prognosis and reassurance about nonabandonment were helpful to patients. Researchers studied how patients with breast cancer and healthy women reacted to two levels of prognostic disclosure and reassurance portrayed in four different video vignettes.[29] Explicitness and reassurance decreased uncertainty and anxiety. The authors cautioned that the nature of the findings is experimental.

### Oncologist Attitudes and Preferences

Studies strongly suggest that oncologists’ attitudes and preferences influence their communication and decision-making behaviors in a manner that might change patients’ EOL decisions.

One study found that hospital staff attributed variations in aggressiveness of care near the EOL to physician characteristics, including physician beliefs, attitudes, and socialization within the practice of medicine.[30] As a result, communication about advance directives, prognosis, limiting treatment near the EOL, and acknowledgment that the patient was dying varied significantly among physicians. A 2011 study demonstrated that physicians may recommend different treatments for patients than they would choose for themselves.[31] This section encourages oncology clinicians to reflect on these biases and how to minimize their effects on communication behaviors.

#### Oncologist preferences for noncurative treatments

Oncology clinicians influence patients’ understanding of treatment preferences. Dutch researchers surveyed medical oncologists about their preferences for palliative (noncurative) chemotherapy or observation using case vignettes.[32] The gender, age, and employment status of the oncologist and type of hospital did not influence preferences for chemotherapy. However, older patients or patients without a stated preference were less likely to receive chemotherapy. There was a greater preference for chemotherapy if the anticipated survival gain was at least 3 months, if the treatment was mildly toxic, or if symptoms of disease progression were identified. These findings are consistent with a study of U.S. oncologists that demonstrated a preference for life-sustaining treatment rather than comfort care.[33]

#### Oncologists and shared decision making

In surveys, oncologists are broadly supportive of the concept of shared decision making. However, empirical research demonstrates that oncologists’ communication behaviors frequently do not support shared decision making.

One group of investigators interviewed Australian cancer specialists about their inclusion of patients in decision making and identified several factors that influence patient involvement.[34] Disease-related factors included:

- Stage of disease.
- Availability of treatment options.
- Risks to the patient.

In addition, public perception of the disease and whether there was a clear best treatment option were relevant. Cancer specialists were more likely to include patients in decision making when the disease stage was advanced and treatment options were less certain. Patient characteristics that decreased doctors’ efforts to involve the patient included:

- Increased anxiety.
- Older age.
- Female gender.
- A Mediterranean or Central or Eastern European background.
- A busy professional life.

The doctors were aware of patient preferences for involvement but felt most patients deferred to their expertise. Furthermore, few physicians had a validated approach to determine patient preferences.

#### Oncologist attitudes toward EOL care

Attitudes toward EOL care may also influence the communication and decision-making behaviors of oncologists. In a qualitative study of 18 academic oncologists who were asked to reflect on recent patient deaths, one group of researchers reported that oncologists who viewed EOL care as an important part of their job reported increased job satisfaction.[35] Other investigators reported on a survey of Japanese oncologists to assess the level of burden experienced by oncologists when recommending discontinuation of anticancer treatment.[36] Forty-seven percent reported high levels of burden. Multivariate analysis of determinants of the sense of burden identified the following covariates:

1. Feeling that the patient was being deprived of hope.
2. Concerns that the family would blame the doctor.
3. Concerns that the patient would lose control.
4. Concerns that there was inadequate time to discuss the recommendation.

### Reimbursement for Chemotherapy and Practice Economics

Before 2003, reimbursement for chemotherapy greatly exceeded acquisition costs for medical oncologists. Although the profit margin for chemotherapy has decreased, the treatment remains a significant source of oncologists’ income. Researchers demonstrated that physicians’ decisions to prescribe chemotherapy for patients with advanced cancer was not affected by reimbursement rates, but more costly regimens were more likely with higher rates of reimbursement.[37] Additional results are summarized below:

- Urologists who acquired ownership in intensity-modulated radiation therapy (IMRT) increased their utilization of IMRT (from 13.1% to 32.3%), compared with urologists who did not own IMRT services (from 14.3% to 15.6%).[38] The rate at National Comprehensive Cancer Network cancer centers was unchanged at 8%.
- Oncologists who practice in a fee-for-service setting or those who are paid a salary with productivity incentives are more likely to report that their income increases with higher orders of chemotherapy or growth factors.[39]

### Uncertainty About Options Other Than Disease-Directed Treatments

A final barrier to planning the transition to EOL care may be confusing language when patients begin to ponder forgoing resuscitation and other life-prolonging interventions. On the basis of their experiences or understanding, oncology clinicians, patients, and families assign different—and often valid—meanings to terms such as supportive or palliative. A 2013 systematic review of the literature found widespread inconsistencies in the definitions of supportive care, palliative care, and hospice.[40]

For term definitions and a discussion of clearly communicating the purpose of each level of care for patients with advanced cancer, see the Factors That Influence End-of-Life Care Decisions and Outcomes section.

### References

Quill TE, Holloway RG: Evidence, preferences, recommendations--finding the right balance in patient care. N Engl J Med 366 (18): 1653-5, 2012.22551123
Weeks JC, Catalano PJ, Cronin A, et al.: Patients' expectations about effects of chemotherapy for advanced cancer. N Engl J Med 367 (17): 1616-25, 2012.23094723
Chen AB, Cronin A, Weeks JC, et al.: Expectations about the effectiveness of radiation therapy among patients with incurable lung cancer. J Clin Oncol 31 (21): 2730-5, 2013.23775958
Weinfurt KP, Castel LD, Li Y, et al.: The correlation between patient characteristics and expectations of benefit from Phase I clinical trials. Cancer 98 (1): 166-75, 2003.12833469
Agrawal M, Grady C, Fairclough DL, et al.: Patients' decision-making process regarding participation in phase I oncology research. J Clin Oncol 24 (27): 4479-84, 2006.16983117
Zier LS, Sottile PD, Hong SY, et al.: Surrogate decision makers' interpretation of prognostic information: a mixed-methods study. Ann Intern Med 156 (5): 360-6, 2012.22393131
Weeks JC, Cook EF, O'Day SJ, et al.: Relationship between cancer patients' predictions of prognosis and their treatment preferences. JAMA 279 (21): 1709-14, 1998.9624023
Sekeres MA, Stone RM, Zahrieh D, et al.: Decision-making and quality of life in older adults with acute myeloid leukemia or advanced myelodysplastic syndrome. Leukemia 18 (4): 809-16, 2004.14762444
Lee SJ, Fairclough D, Antin JH, et al.: Discrepancies between patient and physician estimates for the success of stem cell transplantation. JAMA 285 (8): 1034-8, 2001.11209174
Gramling R, Fiscella K, Xing G, et al.: Determinants of Patient-Oncologist Prognostic Discordance in Advanced Cancer. JAMA Oncol 2 (11): 1421-1426, 2016.27415765
Lennes IT, Temel JS, Hoedt C, et al.: Predictors of newly diagnosed cancer patients' understanding of the goals of their care at initiation of chemotherapy. Cancer 119 (3): 691-9, 2013.23011902
Douglas SL, Daly BJ, Lipson AR, et al.: Association between strong patient-oncologist agreement regarding goals of care and aggressive care at end-of-life for patients with advanced cancer. Support Care Cancer 28 (11): 5139-5146, 2020.32060703
Jenkins V, Solis-Trapala I, Langridge C, et al.: What oncologists believe they said and what patients believe they heard: an analysis of phase I trial discussions. J Clin Oncol 29 (1): 61-8, 2011.21098322
Elkin EB, Kim SH, Casper ES, et al.: Desire for information and involvement in treatment decisions: elderly cancer patients' preferences and their physicians' perceptions. J Clin Oncol 25 (33): 5275-80, 2007.18024875
Bruera E, Sweeney C, Calder K, et al.: Patient preferences versus physician perceptions of treatment decisions in cancer care. J Clin Oncol 19 (11): 2883-5, 2001.11387361
Schnadig ID, Fromme EK, Loprinzi CL, et al.: Patient-physician disagreement regarding performance status is associated with worse survivorship in patients with advanced cancer. Cancer 113 (8): 2205-14, 2008.18780322
A controlled trial to improve care for seriously ill hospitalized patients. The study to understand prognoses and preferences for outcomes and risks of treatments (SUPPORT). The SUPPORT Principal Investigators. JAMA 274 (20): 1591-8, 1995 Nov 22-29.7474243
Haidet P, Hamel MB, Davis RB, et al.: Outcomes, preferences for resuscitation, and physician-patient communication among patients with metastatic colorectal cancer. SUPPORT Investigators. Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatments. Am J Med 105 (3): 222-9, 1998.9753025
Downey L, Au DH, Curtis JR, et al.: Life-sustaining treatment preferences: matches and mismatches between patients' preferences and clinicians' perceptions. J Pain Symptom Manage 46 (1): 9-19, 2013.23017611
Gattellari M, Voigt KJ, Butow PN, et al.: When the treatment goal is not cure: are cancer patients equipped to make informed decisions? J Clin Oncol 20 (2): 503-13, 2002.11786580
Robinson TM, Alexander SC, Hays M, et al.: Patient-oncologist communication in advanced cancer: predictors of patient perception of prognosis. Support Care Cancer 16 (9): 1049-57, 2008.18196288
Audrey S, Abel J, Blazeby JM, et al.: What oncologists tell patients about survival benefits of palliative chemotherapy and implications for informed consent: qualitative study. BMJ 337: a752, 2008.18669570
Liu PH, Landrum MB, Weeks JC, et al.: Physicians' propensity to discuss prognosis is associated with patients' awareness of prognosis for metastatic cancers. J Palliat Med 17 (6): 673-82, 2014.24742212
Daugherty CK, Hlubocky FJ: What are terminally ill cancer patients told about their expected deaths? A study of cancer physicians' self-reports of prognosis disclosure. J Clin Oncol 26 (36): 5988-93, 2008.19029419
Keating NL, Landrum MB, Rogers SO, et al.: Physician factors associated with discussions about end-of-life care. Cancer 116 (4): 998-1006, 2010.20066693
Cohen MG, Althouse AD, Arnold RM, et al.: Is Advance Care Planning Associated With Decreased Hope in Advanced Cancer? JCO Oncol Pract 17 (2): e248-e256, 2021.32530807
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Cripe LD, Rawl SM, Schmidt KK, et al.: Discussions of life expectancy moderate relationships between prognosis and anxiety or depression in men with advanced cancer. J Palliat Med 15 (1): 99-105, 2012.22268405
van Vliet LM, van der Wall E, Plum NM, et al.: Explicit prognostic information and reassurance about nonabandonment when entering palliative breast cancer care: findings from a scripted video-vignette study. J Clin Oncol 31 (26): 3242-9, 2013.23940230
Larochelle MR, Rodriguez KL, Arnold RM, et al.: Hospital staff attributions of the causes of physician variation in end-of-life treatment intensity. Palliat Med 23 (5): 460-70, 2009.19324922
Ubel PA, Angott AM, Zikmund-Fisher BJ: Physicians recommend different treatments for patients than they would choose for themselves. Arch Intern Med 171 (7): 630-4, 2011.21482835
Koedoot CG, De Haes JC, Heisterkamp SH, et al.: Palliative chemotherapy or watchful waiting? A vignettes study among oncologists. J Clin Oncol 20 (17): 3658-64, 2002.12202667
Kozminski MA, Neumann PJ, Nadler ES, et al.: How long and how well: oncologists' attitudes toward the relative value of life-prolonging v. quality of life-enhancing treatments. Med Decis Making 31 (3): 380-5, 2011 May-Jun.21088130
Shepherd HL, Butow PN, Tattersall MH: Factors which motivate cancer doctors to involve their patients in reaching treatment decisions. Patient Educ Couns 84 (2): 229-35, 2011.21112174
Jackson VA, Mack J, Matsuyama R, et al.: A qualitative study of oncologists' approaches to end-of-life care. J Palliat Med 11 (6): 893-906, 2008.18715182
Otani H, Morita T, Esaki T, et al.: Burden on oncologists when communicating the discontinuation of anticancer treatment. Jpn J Clin Oncol 41 (8): 999-1006, 2011.21764830
Jacobson M, O'Malley AJ, Earle CC, et al.: Does reimbursement influence chemotherapy treatment for cancer patients? Health Aff (Millwood) 25 (2): 437-43, 2006 Mar-Apr.16522584
Mitchell JM: Urologists' use of intensity-modulated radiation therapy for prostate cancer. N Engl J Med 369 (17): 1629-37, 2013.24152262
Malin JL, Weeks JC, Potosky AL, et al.: Medical oncologists' perceptions of financial incentives in cancer care. J Clin Oncol 31 (5): 530-5, 2013.23269996
Hui D, De La Cruz M, Mori M, et al.: Concepts and definitions for "supportive care," "best supportive care," "palliative care," and "hospice care" in the published literature, dictionaries, and textbooks. Support Care Cancer 21 (3): 659-85, 2013.22936493

## Supportive Care, Palliative Care, and Hospice in Advanced Cancer

### Importance of a Name

Surveys have identified the term palliative care as a potential impediment to referral to a palliative care clinic.[1] A 2013 report from a single institution that changed the name of its palliative care service to supportive care demonstrated that outpatients were referred sooner after first hospital registration (median, 9.2 months vs. 13.2 months; P < .001) and sooner after the first diagnosis of advanced cancer (median, 5.2 months vs. 6.9 months; P < .001).[2] Although it is unclear how patients interpret these various terms, investigators in a 2018 study who offered breast cancer patients written information about supportive care, palliative care, and/or hospice care found that patients reported more interest in, and were more likely to accept articles about, supportive care versus hospice or palliative care.[3][Level of evidence: II]

#### Oncologists’ attitudes toward palliative care

The European Society of Medical Oncology surveyed its members about their attitudes toward and involvement in palliative care for patients with advanced cancer.[4] Eighty-eight percent of respondents endorsed the belief that medical oncologists should coordinate end-of-life (EOL) care, but 42% felt they were inadequately trained for the task. Relatively few respondents collaborated with a palliative care specialist (35%) or inpatient hospice services (26%).

#### Public attitudes toward palliative care

Public attitudes toward palliative care depend on the description of the service. A 2011 public opinion poll of more than 100 consumers found a lack of knowledge about palliative care among more than 75% of interviewees.[5] After the opinion poll was taken, the definition of palliative care was revised for the public. In the new definition, palliative care is described as “specialized medical care for people with serious illnesses.” The focus of care is defined as relief from pain and other symptoms, regardless of diagnosis. Included in the definition are patient and family quality of life (QOL), the interdisciplinary team of specialists, and the statement that palliative care is appropriate at any age, at any stage of illness, and in conjunction with curative treatment.[5]

### Best Supportive Care

The ability to safely administer multiple cycles of chemotherapy depends on a range of interventions to minimize adverse effects. Most oncologists recognize that anticipating, recognizing, and responding to common adverse events with antiemetics, hematopoietic growth factors to reduce the occurrence of red blood cell transfusions or risks of neutropenia-associated infections, transfusions, medications to alleviate anxiety or depression, and analgesics for pain are mandatory skill sets in medical oncology. In this context, supportive care is an adjunct to the goal of maximizing the benefits of disease-directed treatment while minimizing potential decline in a patient’s health-related QOL.

Three points about the term supportive care are relevant to this section:

1. Inadequate attention is paid to symptoms or health-related QOL during routine oncology evaluations. Although oncologists may overestimate their skillfulness, it is prudent to refer patients with burdensome symptoms to physicians who have a specific interest in health-related QOL and who have expertise in symptom management. The goal is always optimal supportive care; at times, a palliative care specialist may be required.
2. The term best supportive care has been used to describe the care received by patients when they are no longer receiving disease-directed treatment. It is unlikely that best supportive care—even when defined within protocols—would be confused with the specialized palliative care provided to patients with advanced cancer.
3. Referring clinicians and their patients may prefer the term supportive care because it avoids the negative connotation of the term palliative care.

### Palliative Care

Palliative care is an interdisciplinary model of care focused on patients with serious or life-threatening illnesses and their families. The goals of palliative care are to:

- Reduce illness burden, relieve suffering, and maintain QOL through interventions that maintain physical, psychological, social, and spiritual well-being.
- Improve communication and care coordination.
- Ensure that care is consistent with the values and preferences of the patient.
- Ensure that dying occurs with minimal suffering and maximum opportunities for closure.

Palliative care is generally provided by physicians, advance practice clinicians, nurses, social workers, and/or chaplains. Palliative care teams typically focus on the following:

- Alleviation of uncontrolled symptoms.
- Goals of care.
- Distress related to the process of dying.
- Family burden.

Palliative care is both a philosophy of care and an organized, highly structured system for delivering care. Palliative care goes beyond the traditional disease model to include goals of care such as the following:

- Enhanced QOL.
- Optimization of function.
- Informed and active decision making.
- Opportunities for closure and personal growth.

Palliative care can be delivered concurrently with life-prolonging care or as the main focus of care. For more information, see the Integrating Palliative Care and Conventional Cancer Care section.

The term palliative care has often been used to communicate the noncurative intent of chemotherapy for patients with advanced cancer or to signal, without clarifying the intent, the transition away from chemotherapy. This use may contribute to the persistent and pervasive sense that palliative care is equivalent to EOL care. However, palliative care is a specialized approach to the care of patients with serious or life-threatening illnesses; it is guided by principles and accomplished via a specific—but by no means exclusive—skill set distinct from the skills required to prescribe and manage chemotherapy.

### Hospice

Hospice is a team-oriented approach to providing expert medical care, pain management, and emotional and spiritual support for patients whose life expectancy is 6 months or less. For more information, see Hospice.

### References

Fadul N, Elsayem A, Palmer JL, et al.: Supportive versus palliative care: what's in a name?: a survey of medical oncologists and midlevel providers at a comprehensive cancer center. Cancer 115 (9): 2013-21, 2009.19235253
Dalal S, Palla S, Hui D, et al.: Association between a name change from palliative to supportive care and the timing of patient referrals at a comprehensive cancer center. Oncologist 16 (1): 105-11, 2011.21212438
Fishman JM, Greenberg P, Bagga MB, et al.: Increasing Information Dissemination in Cancer Communication: Effects of Using "Palliative," "Supportive," or "Hospice" Care Terminology. J Palliat Med 21 (6): 820-824, 2018.29676957
Cherny NI, Catane R; European Society of Medical Oncology Taskforce on Palliative and Supportive Care: Attitudes of medical oncologists toward palliative care for patients with advanced and incurable cancer: report on a survery by the European Society of Medical Oncology Taskforce on Palliative and Supportive Care. Cancer 98 (11): 2502-10, 2003.14635087
Center to Advance Palliative Care: 2011 Public Opinion Research on Palliative Care: A Report Based on Research by Public Opinion Strategies. New York, NY: The Center to Advance Palliative Care, 2011. Available online (https://media.capc.org/filer_public/18/ab/18ab708c-f835-4380-921d-fbf729702e36/2011-public-opinion-research-on-palliative-care.pdf). Last accessed Jan. 23, 2025.

## Strategies to Improve Patient-Oncologist Communication and Decision Making in Advanced Cancer

Several strategies can potentially improve the quality of oncologist-patient communication and decision making and facilitate the transition to end-of-life (EOL) care for patients who have advanced cancer. For more information, see the Education and Training in Cancer Communication section in Communication in Cancer Care.

This section summarizes information relevant to the following strategies:

1. Improving prognostication or prognostic communication.
2. Promoting advance care planning.
3. Providing patients with materials to prepare for consulting with the oncologist.
4. Utilizing decision aids.
5. Integrating specialized palliative care services into conventional cancer care.

### Improving Prognostication

A comprehensive review of various strategies to improve prognostication is beyond the scope of this summary. One study has recently published a concise overview.[1] There are several sources of prognostic information:

- Clinical predictions of survival.
- Patient performance status.
- Patient-reported health-related quality of life (QOL), which is a prognostic factor in patients with advanced cancer. In one study of patients with locally advanced non-small cell lung cancer (NSCLC), scores on the European Organization for Research and Treatment of Cancer Quality of Life Questionnaire C30 (EORTC QLQ-C30) replaced the classic prognostic factors, including Karnofsky Performance Status (KPS), on multivariate analysis.[2] Patients with EORTC QLQ-C30 scores of 66.7 or higher had a median overall survival (OS) of 27.1 months, compared with 15.4 months for patients with lower scores. However, a single measure of QOL may be sufficient.
  Other investigators reported on the prognostic impact of a single self-reported QOL item in a cohort of almost 2,500 patients with newly diagnosed lung cancer.[3] Patients with a clinically significant QOL deficit had a median survival of 1.6 years, compared with 5.6 years without a deficit. Older age, worse performance status, and advanced stage of disease were also significant predictors; the QOL measure maintained independent influence on multivariable analysis.
- Formal prognostic systems using multiple variables.

### Novel Strategies to Improve Communication of Prognosis

An Australian study demonstrated that most patients with metastatic cancer wanted information about life expectancy or prognosis; some patients thought that receiving estimates of worst-, typical-, and best-case outcomes would be acceptable.[4] Other investigators proposed that percentiles derived from multiple published OS curves for metastatic cancer would serve as the basis for estimating best- and worst-case scenarios.[5] Their subsequent work has established the following:

- The method is reliable and accurate. For front-line chemotherapy in metastatic breast cancer or NSCLC, researchers could accurately estimate outcomes by using simple multiples of the median derived from an OS curve.[6] For example, for patients with metastatic breast cancer, the worst-case scenario for predicted survival was 6.3 months, and the best-case scenario was 55.8 months. Accuracy was lower for worst-case scenarios. Similar results have been demonstrated for advanced-stage lung cancer.[7]
- Oncologists' survival estimates may serve as a reasonable means to estimate best-case, worst-case, and typical outcomes. Researchers used the responses from oncologists who were asked to estimate expected survival time for each patient with advanced cancer enrolled in a randomized, double-blind, placebo-controlled trial of sertraline.[8] The oncologists were asked to record their estimates as a median time for a group of identical patients. The accuracy of the oncologists’ estimates was defined by the proportion of patients with an observed survival time bounded by prespecified multiples of their estimated survival times. The median OS of the cohort of 114 patients was 11 months. Sixty-three percent of the patients had an observed survival ranging from half to double the oncologists' estimates. Although the authors concluded that the oncologists’ estimates may serve as the basis for predicting survival, other factors such as the KPS were more predictive of outcome on multivariate analysis.
- The approach is a reasonable way to communicate life expectancy, as judged by people who have cancer. Cancer patients completed a survey after reviewing two formats for explaining life expectancy to a hypothetical patient: either three scenarios (typical, best-case, or worst-case outcomes) or median survival. More respondents agreed that having the three scenarios explained would make sense, be helpful, convey hope, and reassure.[9] For information about their own life expectancies, 88% of respondents preferred being presented with all three scenarios.

### Advance Care Planning (ACP)

The 1990 Patient Self-Determination Act guarantees patients the right to accept or refuse treatment and to complete advance medical directives to document their EOL preferences or to appoint someone to make decisions on their behalf in the event that their ability to make decisions is compromised. Studies indicate, however, that many patients have not participated in effective ACP. Several reasons might explain the underuse of ACP:[10-12]

1. Initial studies of ACP did not demonstrate the anticipated improvement in outcomes.
2. Physicians and patients are ambivalent about ACP.
3. Patients’ preferences may vary over time.
4. There was a failure to transfer information about preferences between inpatient and outpatient settings or other venues of care.

This section provides a glossary of ACP terms and highlights the ambivalence that surrounds ACP. It includes a review of subsequent evidence that demonstrates the benefit of ACP, suggesting that a more nuanced approach to ACP will improve care near the EOL for patients who have advanced cancer.

#### The language of ACP

A brief glossary of the language of ACP may minimize confusion.

- Advance directive: A formal legal document that goes into effect when a patient is incapacitated and unable to speak for himself or herself. This document, authorized by state laws, allows patients to retain their personal autonomy by providing instructions for care if they become incapacitated and cannot make decisions. The two main elements of an advance directive are a living will and a durable power of attorney for health care.
  - Living will: A written document that informs the oncologist how the patient wants to be treated if the patient is dying or permanently unconscious and unable to make decisions about treatment. In a living will, patients can specify the life-sustaining procedures they would want, the procedures they would not want, and the conditions under which each choice would apply. Patients may also wish to prepare separate documents to express their specific wishes about other medical treatments such as blood transfusion, organ and tissue donation, and kidney dialysis.
  - Durable power of attorney for health care: Also known as a health care proxy. A legal document authorizing another person (a health care proxy, surrogate, or health care agent) to make medical decisions when the patient is unable to do so. It is important for the proxy to be familiar with the patient’s values and wishes, so that he or she can speak competently on behalf of the patient and make appropriate decisions. Ideally, the patient and proxy will discuss these issues during the course of the illness, rather than during a medical crisis.
    A proxy can be chosen in addition to, or instead of, a living will. A durable power of attorney for health care allows the patient to be more specific about medical treatment than does a living will.

#### Documenting ACP decisions

Additional documents to communicate the patient’s preferences include the following:

- Do-not-resuscitate (DNR) order: Tells medical staff in a hospital or nursing facility not to administer cardiopulmonary resuscitation (CPR) if the patient’s heart stops beating.
- Out-of-hospital DNR order: Alerts emergency medical personnel to the nonhospitalized patient’s wishes regarding CPR and other resuscitation measures. The legal requirements for an out-of-hospital DNR order may differ from state to state but typically involve a document signed by the patient, a witness, and the physician. Patients and informal caregivers are advised to have multiple copies so that the document is immediately available to emergency medical personnel.
- Do-not-intubate (DNI) order: Tells medical staff in the hospital or nursing facility that the patient does not wish to be put on a breathing machine.
- Physician Orders for Life-Sustaining Treatment (POLST): Allows patients to specify the kind of medical treatment they want near the EOL. Printed and signed by both doctor and patient, the POLST document helps give seriously ill patients more control over their EOL care.
- Medical Orders for Life-Sustaining Treatment (MOLST): Intended to ensure that patients receive EOL care according to their wishes and best interests. The MOLST document allows patients to indicate the type of care they would like to receive in situations when they cannot communicate, such as during resuscitation, intubation, and other life-sustaining treatments. Under current law, the information in a MOLST document must be adhered to, in both the home and the hospital, by all medical practitioners, including emergency medical service personnel.

#### Patient and physician ambivalence about ACP

One of the major impediments to effective ACP is patient and physician ambivalence. Patients with advanced cancer may be ambivalent about engaging in ACP with their oncologists because they perceive that oncologists are reluctant to engage in this discussion.[11,13] For example, one group of researchers reported that 87% of women with metastatic breast cancer had discussed EOL decisions with family or friends; 75% had gathered information about advance directives; and 66% had a written advance directive.[14] However, only 19% of those women had discussed EOL decisions with providers; only 24% had shared the written advance directives with the providers; and only 14 % of providers were aware of the advance directives. A study of hospitalized elderly patients similarly found that many had thought about EOL preferences (76.3%) or had an advance care plan (47.9%), but relatively few (30.3%) had discussed them with their physicians.[15]

These results suggest that patients engage in ACP but are reluctant to share their thoughts with their oncologists. Nevertheless, the oncologist is in the best position to know when to bring up the subject of EOL care, so he or she can initiate and thoughtfully guide the ACP discussion.[16]

### ACP Reconsidered

Equivocal evidence is a source of physician ambivalence about ACP. Despite early concerns, however, there is growing evidence that ACP improves EOL care in patients with advanced cancer.

#### Early concerns about limits of ACP

Initial evidence about ACP was not favorable. For example, several studies found that:

- Fewer than 50% of terminally ill patients had advance directives in their medical records.[17-19]
- More than 65% of physicians were unaware that their patients had documented advance directives.[20]
- Advance directives were not documented, were difficult to interpret, or were difficult for surrogates and physicians to follow.[17,21]

#### Potential benefits of ACP

Since the 1990s, randomized trials of ACP have demonstrated some benefit. For example, a randomized study compared usual care with a structured approach that included a motivational conversation with a social worker, and a booklet that described ACP and sought information about the patient’s desired health states and values.[22] The primary outcomes were comparisons of how closely providers and patients agreed about the following:

- Patient preferences to forgo life-prolonging treatment in hypothetical health states.
- Values.
- Personal beliefs about hypothetical health states.

The intervention was associated with increased frequency of ACP discussions between physician and patient (64% vs. 38%; P < .001), and the intervention group had higher levels of agreement for all three outcomes.[22] The effect of ACP on health care outcomes was not studied.

A 2010 study monitored 309 patients older than 80 years and their caregivers for 6 months or until a patient died.[23] Researchers found that patients who engaged in ACP were more likely to have preferences that are known to others, and to receive care consistent with those preferences. In addition, compared with family members of patients in the control group, family members of patients in the intervention (with ACP) group who died had significantly less stress (intervention 5, control 15; P < .001), anxiety (intervention 0, control 3; P = .02), and depression (intervention 0, control 5; P = .002). Also, patient and family satisfaction were higher in the intervention group.[23]

Studies funded by the Agency for Healthcare Research and Quality show that satisfaction in patients aged 65 years and older increased when patients engaged in ACP with their doctors. Specifically, patients who discussed their preferences for EOL care:[24]

- Experienced less anxiety and fear.
- Felt more sense of control over their medical care.
- Believed their physicians had a better understanding of their wishes.

Surrogates experienced similar benefits.[24]

A 2011 report also suggests that ACP contributes significantly to higher-value EOL care. Researchers demonstrated that the association between evidence of ACP and reduced EOL Medicare expenditures varied according to the level of spending on aggressive treatments near the EOL.[25] Treatment-limiting advance directives were associated with lower levels of Medicare spending, lower likelihood of in-hospital death, and increased use of hospice in high-spending regions but not in low- or medium-spending regions. At a minimum, the study suggests that ACP may be one explanation for lower-cost regions.

#### A more nuanced approach to ACP

Advocates maintain that ACP has been too narrowly construed as completion of a document that expresses a patient’s EOL preferences or identifies a surrogate decision maker if a patient can no longer make decisions. Generally speaking, most patients from Western countries express greater needs for information related to their illnesses, treatment options, prognoses, future symptoms, likely trajectories of illness, and the dying process. Younger and more educated patients tend to seek more detailed information, while older patients and those from non-Western cultures tend to prefer nondisclosure. From that perspective, the limitations of ACP can be addressed by reconceptualizing ACP.

One proposal is to imagine ACP as an ongoing discussion designed to prepare patients and their families or friends to participate more meaningfully in future medical decisions, as required.[26] A focus group study of patients and surrogate decision makers identified four salient themes in discussing future health care decisions:[27]

1. Identify values based on experiences and QOL.
2. Choose surrogates wisely and verify that they understand their roles.
3. Decide how much discretion to allow surrogate decision makers.
4. Inform others to prevent conflict.

Before discussing ACP, it is essential that the oncologist determine the information needs of the patient so that communication and ACP can be tailored accordingly.[28]

### Interventions to Support Patient-Oncologist Communication

Various interventions to support patient-oncologist communication have been studied. There are few comparative trials, and the outcomes of interest have varied, so it is not possible to evaluate the interventions. However, the variety of interventions will allow the interested oncology clinician to find one of interest.

#### Written information

A myriad of informational booklets are available for patients to consult; prognostic information is discussed in some of them. Researchers conducted a mixed-methods study of the views of cancer patients on written materials provided by their oncologists.[29] Patients expressed concerns that conflicting information could undermine their trust in their oncologists, and this concern influenced their willingness to consult written materials.

Another caution was raised by a randomized study that compared QOL and satisfaction between lung cancer patients scheduled for surgery who received verbal information only and those who received verbal and written information.[30] There were no differences in patient satisfaction with information; however, patients who received verbal and written information were less satisfied with the hospital stay. Thus, the presentation of written information may have unintended consequences, and oncologists may consider distributing only information that reflects their actual practices.

#### Audiotaped consultations

The impact of simply recording consultations on audiotape is significant, especially given the ease of doing so. In one randomized trial of initial consultations for all stages of cancer, 105 patients received audiotapes and 96 did not.[31] Patients who received the audiotapes were more satisfied and had better recall of information than did those who did not receive the tapes. In addition, younger patients were more satisfied, and older patients experienced enhanced recall. Another study reported similar results.[32]

#### Video-recorded information

The use of videos to facilitate discussions between providers, patients, and families and to assist with informed decision making has been effective in several randomized controlled trials.[33,34] In these studies, patients and caregivers (where appropriate) found the videos acceptable and were comfortable with their content. In the first study, 50 patients with malignant glioma were randomly assigned to hear a verbal narrative or to hear the same verbal narrative and be shown a video that described three types of care:[33]

- Life-prolonging care (extending life at any cost).
- Basic medical care (including most care, but excluding CPR, intubation, mechanical ventilation, and admission to an intensive care unit).
- Comfort care (relieving symptoms, maximizing comfort, and generally avoiding hospitalization).

Participants in the sample had a mean age of 54 years; 44% were female, 50% did not want CPR at baseline, and 76% had advance directives. When asked postintervention about their preferences for type of care, 26% of participants in the verbal control group preferred life-prolonging care, compared with none in the video intervention group. More patients in the video intervention group preferred comfort care than did patients in the verbal control group (91% vs. 22%, respectively).[33]

In the second study, 150 patients with advanced cancer from four cancer centers were randomly assigned to listen to a verbal description of CPR or to listen to the same verbal description and then be shown a 3-minute video of simulated CPR being done on a patient on a ventilator.[34] The primary outcome was participants’ preference for or against CPR measured immediately after exposure to either modality. As in the first study, more patients receiving the video intervention with the narrative decided against CPR than did those receiving only the narrative (79% vs. 51%, respectively). Knowledge scores were also significantly higher in the video arm (P < .001). Results at the 6- to 8-week follow-up demonstrated fairly stable decisions.

In a third single-center, randomized control trial, investigators assigned 150 hospitalized patients with advanced cancer and 44 of their caregivers to one of two groups. One group watched a 6-minute video about hospice, while the other was read an identical verbal description of hospice. The primary outcome, patient preference for hospice, did not significantly change and did not differ between the two groups postintervention (though both groups expressed high levels of preference for hospice at baseline). However, patients who watched the video had improved knowledge of hospice and were less likely to agree with the statement, “I think that hospice care is only about death.” The intervention’s most interesting impact, however, was on hospice use and length of stay. Among patients who died during the study, those who had been in the video group were more likely to have used hospice care (85.2% vs. 63.6%; P = .01) and had a longer hospice length of stay (median, 12 days vs. 3 days; P = .01). Caregivers in the video group were more likely to prefer hospice and had improved hospice knowledge, though findings were limited by the small number of caregivers in the study.[35]

These studies suggest that videos can be useful for improving patient knowledge related to ACP and may even affect patients’ ACP and end-of-life decision making. The results are encouraging regarding the value of videos to supplement oncologist-patient communication and education.

#### Question prompt lists

Patients may have difficulty posing questions about sensitive and difficult issues such as prognosis or EOL care. Prompt lists can help guide patients through such questions. Researchers developed and tested a question prompt list for advanced cancer patients to use during consultation with a palliative care physician.[36] Patients randomly assigned to the intervention arm more frequently asked more questions related to prognosis and EOL issues than did patients in the control group (30% vs. 10%; P = .001). There were no negative effects on patient satisfaction or anxiety. A slightly different strategy—addressing the prompt list to informal caregivers of patients with advanced cancer—was evaluated in another study and appeared promising.[37]

#### Cancer consultation preparation package (CCPP)

A CCPP developed by one group of researchers consists of four components:[38]

1. A booklet that describes the cancer center’s procedures and layout.
2. A booklet that introduces the concept of evidence-based decision making and factors other than evidence that influence decisions.
3. A booklet that describes the patient’s rights and responsibilities.
4. A question prompt list.

A randomized trial of the CCPP versus a control booklet in 164 initial consultations for patients with a variety of cancers at different stages demonstrated that patients receiving the CCPP asked significantly more questions (11 questions vs. 7 questions; P = .005) without increasing their anxiety. However, patients assigned to the CCPP did not participate in decision making more often or more actively than did patients in the control group.[38]

#### Pamphlet and psychologist-facilitated discussion

In a randomized trial, an ACP pamphlet supplemented by a discussion with a psychologist was compared with usual care.[39] Patients in both cohorts had equivalent rates of DNR orders (68% vs. 76%), but DNR orders for the intervention group were placed at a median of 27 days, compared with 12.5 days for the control group (P = .03). Intervention patients were less likely to die in the hospital (19% vs. 50%), and there was no increased sense of anxiety. Interpretation of the study results is hampered by a high rate of loss to follow-up, and the intention-to-treat analysis was not significant.

### Decision Aids

Decision aids are more complicated interventions designed to provide patients with a balanced summary of information about potential treatment options and possible outcomes, allowing patients to make informed decisions consistent with their preferences. Decision aids complement the patient-oncologist relationship and have been studied in two situations relevant to the care of patients with advanced cancer: the decision to undergo chemotherapy in advanced cancer and the decision to prepare for the EOL.

#### The decision to undergo chemotherapy

In a 2011 study of patients with metastatic colorectal cancer who were deciding whether to initiate first-line systemic chemotherapy, 207 patients were randomly assigned to receive either a standard oncology consultation or a standard consultation supplemented by a take-home booklet and audio recording of the consultation.[40] Patients assigned to the decision aid demonstrated increased understanding of the prognosis, treatment options, and goals of treatment. There were no differences in decisional conflict, levels of anxiety, patient achievement of preferred level of involvement in decision making, or treatment selected.

#### The decision to engage in ACP

In a pilot semirandomized trial, patients with advanced cancer who met with a trained care planning mediator were more likely to discuss future preferences with families and friends (but not with their oncologists).[41] Slightly more than half of patients with advanced cancer were willing to meet with an independent trained counselor about ACP. Patients assigned to meet with the mediator tended to be less satisfied with communication with health care professionals and less satisfied with future care. Thus, while ACP with a trained mediator is feasible, the costs of additional personnel may be prohibitive and create unmet expectations in patients.

In a Korean randomized controlled trial, the impact of decision aids on preferences for active treatment, life-prolonging treatment, or hospice care was examined, and knowledge about ACP and cardiopulmonary resuscitation (CPR) was also assessed: 204 patients with advanced cancer were assigned to either a group that received a video and workbook training on ACP (intervention group) or another group that received a video and workbook training on managing cancer pain (control group).[42] Seven weeks post intervention, patients in the intervention group who assumed a prognosis of expected death within several weeks or several months expressed a greater preference for hospice care than patients in the control group. Patients in the intervention group also had greater knowledge about CPR postintervention. There were no statistically significant differences between the two groups with respect to patients documenting advance care preferences or discussing EOL care with their family, friends, or physicians.

#### Decisions related to resuscitation status

Several approaches to facilitate discussion about a patient’s resuscitation preferences and status have been studied. The approaches include the following:

- The use of computer-based prompts to advise the clinician to initiate the discussion.[43]
- An informational DVD and booklet for family caregivers to better understand the resuscitation option.[34]
- Audiovisual vignettes to illustrate the process and outcomes of resuscitation.[44]
- A structured discussion with a clinical psychologist.[39]

In several studies, DNR orders were more common in the intervention group or occurred earlier. The secondary outcomes included earlier and higher rates of discussions with patients and family members regarding resuscitation, lower decisional conflict and uncertainty, and more value clarification. In at least two studies, there was no increase in anxiety and/or depressive symptoms. These decision aids are limited to use among adult patients.

#### Physician attitudes toward decision aids

Researchers conducted a cross-sectional survey of Canadian medical, radiation, and surgical oncologists to determine their levels of awareness and utilization of patient decision aids.[45] Slightly fewer than half (46%) were aware of decision aids relevant to their practices, and only 24% used aids in their practices. Most respondents recognized the important clinical outcomes associated with decision aids, i.e., increased knowledge, reduced anxiety, and increased patient satisfaction. Lack of awareness was the most frequently cited barrier to use (69%), followed by lack of resources (24%) and lack of time to learn about decision aids (24%). Only 3% of respondents cited lack of time as a barrier to the use of decision aids. Strategies to introduce decision aids into clinical practice are clearly needed and could start with educating oncologists about available decision aids.

### Integrating Palliative Care and Conventional Cancer Care

In 2016, the American Society of Clinical Oncology published an updated guideline advising its membership that "inpatients and outpatients with advanced cancer should receive dedicated palliative care services, early in the disease course, concurrent with active treatment."[46] The authors primarily based their recommendation on two randomized clinical trials of palliative care interventions during conventional cancer care for people with metastatic cancer that supported results of several older and inconclusive randomized clinical trials.[47] Subsequently, two additional randomized trials comparing outcomes between cohorts of patients who received conventional oncology care and a concurrent palliative care intervention or conventional oncology care at different times have been reported.[48,49] The four studies are summarized below:

#### ENABLE II: A randomized trial of an advance practice nurse–led psychoeducational intervention

This group of investigators reported the results of Project ENABLE (Educate, Nurture, Advise Before Life Ends).[50] Three hundred twenty-two patients with advanced cancer were randomly assigned to receive either usual care or a multicomponent psychoeducational intervention conducted by advance practice nurses concurrent with usual care. The primary outcomes were QOL, as measured by the Functional Assessment of Chronic Illness Therapy for Palliative Care; symptom intensity, as measured by the Edmonton Symptom Assessment Scale; and mood, as measured by the Center for Epidemiological Studies Depression Scale.

The intervention was based on the chronic care model; the goal was to encourage patient involvement in care planning, self-management, and empowerment. The intervention consisted of four weekly educational sessions and a monthly follow-up. The four modules consisted of the following:

1. Problem solving.
2. Communication and social support.
3. Symptom management.
4. ACP and unfinished business.

The mean scores for the participants in the intervention group were 4.6 higher for QOL (P = .02); 27.8 lower for symptom intensity (P = .06); and 1.8 lower for depressed mood (P = .02). Patients who died during the study had less-marked treatment effects. There was no difference in OS or use of chemotherapy or aggressive medical care near the EOL. Furthermore, there were no differences between groups in rates of referral to palliative care or hospice.[50]

#### Randomized trial of concurrent palliative care and standard oncology care for patients with metastatic lung cancer

The second study randomly assigned 151 patients with newly diagnosed metastatic NSCLC to receive either standard oncology care or standard oncology care with the early integration of palliative care. Patients assigned to palliative care met with a member of the palliative care team within 3 weeks of diagnosis. General guidelines called for palliative care clinicians to pay specific attention to the following:

- Assessment of physical and psychological symptoms.
- Establishment of goals of care.
- Assistance with decision making about treatment.
- Coordination of care on the basis of the patient’s individual needs.

The primary and secondary analyses of the study have been reported in an original publication and then in several secondary publications,[51-53] summarized below.

- The primary outcomes of the trial were QOL (as measured by the Functional Assessment of Cancer Therapy—Lung) and mood (as measured by the Hospital Anxiety and Depression Scale). The outcomes were assessed at baseline and again at 12 weeks. The secondary outcomes were survival and measures of EOL care abstracted from medical records. Patients assigned to receive concurrent palliative care reported higher QOL (98.0 vs. 91.5; P = .01). Fewer patients in the palliative care arm had depressive symptoms (16% vs. 38%; P = .05). Furthermore, the median OS of patients in the palliative care cohort was longer (11.6 months vs. 8.9 months; P = .02). Finally, fewer patients in the palliative care cohort received aggressive treatment—chemotherapy within 14 days of death, no hospice care, or hospital admission within 3 days of death—than did those in the usual care group (33% vs. 54%; P = .05).[51]
- Given how important patient understanding of prognosis is to treatment preferences and decision making, a secondary analysis was conducted to assess the effect of palliative care on the accuracy of patient perception of prognosis and goals of anticancer therapy.[52] At baseline, 31.7% of patients with metastatic NSCLC reported that their cancer was curable. Patients who received early palliative care were more likely to report knowing the goal of treatment at 12 and 18 weeks than were patients in the standard care cohort (e.g., at 12 weeks, 39.5% of patients in the standard care cohort reported that their cancer was curable, compared with 22.2% in the palliative care cohort; P = .08). Most patients in both arms maintained a belief that the goal of therapy was to “get rid of all my cancer.” Nonetheless, 82.5% of patients in the palliative care arm maintained or developed an accurate perception of prognosis, compared with 59.6% in the standard care arm.
  Patients in the palliative care cohort who had an accurate understanding of prognosis were less likely to receive chemotherapy than were patients who had an inaccurate understanding of prognosis (9.4% vs. 50%; P = .02). A similar effect was not seen in patients in the standard care arm; the percentage of patients in the standard care arm receiving chemotherapy did not differ by perception of prognosis.
- An additional secondary analysis sought to determine whether early palliative care affected chemotherapy use or hospice enrollment.[53] Investigators reported that the overall number of regimens did not change on the basis of assignment to the standard care or palliative care cohort. However, patients assigned to palliative care were less likely to receive chemotherapy within 60 days of death (52.5% vs. 70.1%; P = .05). With respect to hospice enrollment, although there was no significant difference in the rates of referral, about twice as many participants receiving early palliative care compared with usual care received hospice care for longer than 1 week (60% vs. 33.3%; P = .004).
- The investigators also tested the hypothesis that the observed improvement in survival was attributable to improvement in depression.[54] Depression predicted worse survival, and patients assigned to the palliative care cohort experienced higher rates of improvement. However, there was no significant correlation with improvement in survival.
- One group of investigators reported a study of the initial consultation summary from the electronic medical record to determine the frequency of management of symptoms, illness understanding, treatment decision making, patient and family caregiver coping, and care planning.[55] The median time of the initial consultation was 55 minutes (range, 20–120 minutes), and most of the time was spent addressing symptoms, coping, and understanding of illness. Patients with lower QOL were likely to require more time.
- An additional qualitative analysis of clinical notes was performed to identify key elements of the palliative care consultations and their timing and compare the content of palliative care versus oncologic visits.[56] Palliative care consultations were more likely to focus on symptoms, psychosocial issues, and clarifying understanding of illness. Oncologists focused more on treatment of cancer and management of complications. The contribution of these differences to the observed outcomes is not known.

#### Cluster-randomized trial of early palliative care for patients with advanced cancer

This single-blinded study reported the outcomes of patients who were assigned to receive palliative care and conventional cancer care or conventional cancer care alone.[57] The palliative care intervention included an initial visit followed by monthly palliative care clinic visits, with telephone follow-up and direct access to the inpatient palliative care unit as needed. The primary outcome was the change score for the Functional Assessment of Chronic Illness Therapy—Spiritual Well-Being (FACIT-Sp) at 3 months. Secondary outcomes were the FACIT-Sp at 4 months and other validated measures of QOL, symptom burden, satisfaction with care, and quality of medical interactions at 3 and 4 months.

There were no statistically significant differences in the change FACIT-Sp scores at 3 months, but differences did emerge at 4 months; in addition, there were significant differences in the secondary outcomes at 3 and 4 months. These results confirm the benefit of concurrent palliative care and suggest that the benefits of palliative care will increase over time. The coordination of care between the Princess Margaret Cancer Centre and Community Care Access Centres may make the findings difficult to replicate.[57]

#### ENABLE III: Early versus delayed initiation of concurrent palliative oncology care

This study compared the outcomes of 207 patients randomly assigned to begin receiving palliative care interventions within 30 to 60 days of diagnosis versus 3 months from diagnosis of advanced cancer.[49] The weekly telephone coaching sessions described in the summary of ENABLE II included a three-session life review component and was designed to specifically intervene with caregivers. The outcomes of interest were QOL, symptom impact, mood, resource use, and improved 1-year survival. Early palliative oncology care was associated with improved survival (63% vs. 48%, P = .038). There were, however, no statistically significant differences in patient-reported outcomes or resource use. Furthermore, the OS log-rank test did not reveal a significant difference, suggesting the survival curves converge after the 1-year point.

A few limitations of the study potentially complicate interpretation. First, the study did not meet its accrual goal of 360 patients, in part because of high rates of ineligibility after screening and patient refusal. Second, the intention-to-treat analysis may have missed differences due to variations in the “amount” of the intervention completed. Third, the multiple outcomes may have limited the statistical power to detect meaningful differences, especially given the smaller-than-desired sample size. Thus, a more-accurate interpretation of the results may be that the optimal time of palliative care interventions remains undetermined.

In contrast to the results for patients, the ENABLE III intervention improved outcomes for caregivers.[58] A total of 122 caregivers were randomly assigned to receive, either early or at a later time, three weekly telephone coaching sessions, monthly follow-up, and a bereavement call. For all caregivers, the early intervention was associated with lower depression scores at 3 months. Caregivers of decedents who received palliative care early had lower depression and burden in the terminal phase. These results are notable in establishing a benefit to caregivers.

#### Challenges to the early integration of palliative care

Several of the more relevant challenges to the integration of palliative care into standard oncology care are listed below, followed by a summary of the available data.

- Availability of specialty palliative care services: In a survey published in 2010, only 59% of National Cancer Institute (NCI) cancer centers and 33% of non-NCI cancer centers reported having palliative care programs, with the level of resources for programs varying widely.[59] However, at least half of the executives surveyed indicated an interest in expanding services in the coming years, although there were differences based on the NCI designation. Of interest is that the identified impediments to developing services further were more related to poor reimbursement or limited institutional budget than to concerns about the evidence supporting the services.
  One potential solution to the workforce shortage is to train oncologists in the skills of so-called primary palliative care.[60] The skills of primary palliative care include basic discussions about prognosis, goals of treatment, suffering, or code status and symptom management, thus reserving specialty referrals for assistance with conflict resolution regarding goals or methods of treatment.
- Oncologists’ referral of patients to specialty palliative care services: A survey of Canadian cancer specialists demonstrated that 94% had access to at least one component of palliative care services, but only 36% of respondents had access to comprehensive palliative care services.[61] In addition, 80% of physicians indicated that they always or usually referred terminally ill patients, with the time of referral evenly split between at diagnosis, during palliative chemotherapy, or after chemotherapy or transfusions were stopped.
- Oncologist attitudes toward palliative care.
- Patient acceptance.
- Unanswered questions: The results of the four randomized trials summarized above provide a compelling rationale for providing access to palliative care services concurrent with conventional cancer care.[62,63] However, there are unanswered questions that might diminish enthusiasm for the systematic integration of palliative care into conventional cancer care:
  1. Who are the patients to be served? A review of the eligibility criteria demonstrates that patients were chosen on the basis of characteristics in addition to the disease stage, such as physician-estimated patient survival. As indicated in Table 1, many potentially eligible patients declined to participate in the trials. The various reasons for their nonparticipation require clarification to identify potential confounders that may affect the likelihood of benefit from services.
  2. When is the optimal time to introduce specialty palliative care?
  3. Which components of palliative care are critical for positive outcomes? The ENABLE interventions included multiple educational sessions led by an advanced practice nurse over the course of months. In addition, there was only a single scheduled palliative care consultation at study initiation. This suggests that alternatives to the multidisciplinary palliative care teams described by other investigators [48,52] may be impactful.
  4. What is the mechanism of action of the putative benefit? This question seems especially critical because cancer centers struggle with declining reimbursements, so there is a legitimate need to optimize the value of the supportive services provided.
  5. What are the mechanisms that explain the observed improvement in survival?[50,64,65]
- Funding: A survey of 20 outpatient palliative care clinics indicated that billing for services and institutional support were the primary sources of funding, but most identified funding for staff as a major challenge.[66]

Table 1. Characteristics of Subjects in Randomized Trials of Concurrent Palliative Care in Advanced Cancer

Author/Reference | Recruitment (No.) | | | Selected Eligibility Criteria
| Randomized | Potentially Eligible | Screened | Type of Cancer | Time from Diagnosis | Oncologist-Estimated Survival
Bakitas et al., 2009 [50] | 322 | 681 | 1,222 | GI; lung; GU; breast | Within 8–12 weeks | ~1 year
Temel et al., 2010 [51] | 151 | | | Lung | ≤8 weeks | Not specified
Zimmermann et al., 2014 [48] | 461 | 892 | 3,293 | GI; lung; GU; breast; gynecologic | Not specified | 6–24 months
Bakitas et al., 2015 [49] | 207 | 545 | 1,468 | GI; lung; GU; breast; other; hem malignancy | Early: 30–60 days; delayed: >90 days | 6–24 months

GI = gastrointestinal; GU = genitourinary, hem = hematologic.

Table 2. End Points and Measures from Randomized Trials of Concurrent Palliative Care in Advanced Cancer

End Point | Measure
| Bakitas et al., 2009 (ENABLE II) [50] | Temel et al., 2010 [51] | Zimmermann et al., 2014 [48] | Bakitas et al., 2015 (ENABLE III) [49]
Quality of life | FACIT-Pal | FACT-L | FACIT-Sp; QUAL-E | FACIT-Pal; QUAL-E
Mood | CES-D | HADS | — | —
Symptoms | ESAS | — | QUAL-E | ESAS
Satisfaction with care | — | — | FAMCARE-P16 | —
Medical interactions | — | — | CARES-MIS | —
Chemotherapy use | NR | NR | NR | NR
End-of-life resource use | Hospital/ICU days; ED visits | Hospital/ICU days; ED visits; chemotherapy within 14 days of death; hospice utilization; place of death | Not specified | Hospital/ICU days; ED visits; chemotherapy within 14 days of death; place of death
Median overall survival | Yes | Yes | — | Yes

CARES-MIS = Cancer Rehabilitation Evaluation System Medical Interaction Subscale; CES-D = Center for Epidemiologic Studies Depression Scale; ED = emergency department; ENABLE = Educate, Nurture, Advise Before Life Ends; ESAS = Edmonton Symptom Assessment System; FACIT-Pal = Functional Assessment of Chronic Illness Therapy - Palliative Care; FACIT-Sp = Functional Assessment of Chronic Illness Therapy - Spiritual Well-Being; FACT-L = Functional Assessment of Cancer Therapy - Lung; FAMCARE-P16 = 16-item measure of patient satisfaction with cancer care; HADS = Hospital Anxiety and Depression Scale; ICU = intensive care unit; NR = outcome measured but not reported; QUAL-E = Quality of Life at the End of Life; — = outcome not measured.

Table 3. Studies on the Timing of Oncology Care and Palliative Care

Outcome | Author/Reference
| Bakitas et al., 2009 (ENABLE II) [50] | Temel et al., 2010 [51] | Zimmermann et al., 2014 [48] | Bakitas et al., 2015 (ENABLE III) [49]
Quality of life | PC | PC | NS at 3 months; PC at 4 months | NS
Mood | PC | PC | NS at 3 months; PC at 4 months | NS
Symptoms | NS | — | NS at 3 months; PC at 4 months | NS
Satisfaction with care | — | — | PC at 3 months; PC at 4 months | —
Medical interactions | — | — | NS at 3 months; NS at 4 months | —
End-of-life resource use | NS | NR | NR | NS
Overall survival | NS | PC | NR | Early

ENABLE = Educate, Nurture, Advise Before Life Ends; NR = outcome measured but not reported; NS = no significant difference in outcomes detected; PC = favors palliative care intervention; — = outcome not measured.

### References

Krishnan M, Temel JS, Wright AA, et al.: Predicting life expectancy in patients with advanced incurable cancer: a review. J Support Oncol 11 (2): 68-74, 2013.23967494
Movsas B, Moughan J, Sarna L, et al.: Quality of life supersedes the classic prognosticators for long-term survival in locally advanced non-small-cell lung cancer: an analysis of RTOG 9801. J Clin Oncol 27 (34): 5816-22, 2009.19858383
Sloan JA, Zhao X, Novotny PJ, et al.: Relationship between deficits in overall quality of life and non-small-cell lung cancer survival. J Clin Oncol 30 (13): 1498-504, 2012.22454418
Hagerty RG, Butow PN, Ellis PA, et al.: Cancer patient preferences for communication of prognosis in the metastatic setting. J Clin Oncol 22 (9): 1721-30, 2004.15117995
Stockler MR, Tattersall MH, Boyer MJ, et al.: Disarming the guarded prognosis: predicting survival in newly referred patients with incurable cancer. Br J Cancer 94 (2): 208-12, 2006.16404420
Kiely BE, Soon YY, Tattersall MH, et al.: How long have I got? Estimating typical, best-case, and worst-case scenarios for patients starting first-line chemotherapy for metastatic breast cancer: a systematic review of recent randomized trials. J Clin Oncol 29 (4): 456-63, 2011.21189397
Kiely BE, Alam M, Blinman P, et al.: Estimating typical, best-case and worst-case life expectancy scenarios for patients starting chemotherapy for advanced non-small-cell lung cancer: a systematic review of contemporary randomized trials. Lung Cancer 77 (3): 537-44, 2012.22609149
Kiely BE, Martin AJ, Tattersall MH, et al.: The median informs the message: accuracy of individualized scenarios for survival time based on oncologists' estimates. J Clin Oncol 31 (28): 3565-71, 2013.24002504
Kiely BE, McCaughan G, Christodoulou S, et al.: Using scenarios to explain life expectancy in advanced cancer: attitudes of people with a cancer experience. Support Care Cancer 21 (2): 369-76, 2013.22717918
Teno JM: Advance directives: time to move on. Ann Intern Med 141 (2): 159-60, 2004.15262674
Barnes KA, Barlow CA, Harrington J, et al.: Advance care planning discussions in advanced cancer: analysis of dialogues between patients and care planning mediators. Palliat Support Care 9 (1): 73-9, 2011.21352620
Hawkins NA, Ditto PH, Danks JH, et al.: Micromanaging death: process preferences, values, and goals in end-of-life medical decision making. Gerontologist 45 (1): 107-17, 2005.15695421
Dow LA, Matsuyama RK, Ramakrishnan V, et al.: Paradoxes in advance care planning: the complex relationship of oncology patients, their physicians, and advance medical directives. J Clin Oncol 28 (2): 299-304, 2010.19933909
Ozanne EM, Partridge A, Moy B, et al.: Doctor-patient communication about advance directives in metastatic breast cancer. J Palliat Med 12 (6): 547-53, 2009.19508141
Heyland DK, Barwich D, Pichora D, et al.: Failure to engage hospitalized elderly patients and their families in advance care planning. JAMA Intern Med 173 (9): 778-87, 2013.23545563
Emanuel LL, Danis M, Pearlman RA, et al.: Advance care planning as a process: structuring the discussions in practice. J Am Geriatr Soc 43 (4): 440-6, 1995.7706637
Teno JM, Licks S, Lynn J, et al.: Do advance directives provide instructions that direct care? SUPPORT Investigators. Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatment. J Am Geriatr Soc 45 (4): 508-12, 1997.9100722
Teno J, Lynn J, Wenger N, et al.: Advance directives for seriously ill hospitalized patients: effectiveness with the patient self-determination act and the SUPPORT intervention. SUPPORT Investigators. Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatment. J Am Geriatr Soc 45 (4): 500-7, 1997.9100721
Bradley EH, Rizzo JA: Public information and private search: evaluating the Patient Self-Determination Act. J Health Polit Policy Law 24 (2): 239-73, 1999.10321357
Virmani J, Schneiderman LJ, Kaplan RM: Relationship of advance directives to physician-patient communication. Arch Intern Med 154 (8): 909-13, 1994.8154954
Teno JM, Lynn J, Phillips RS, et al.: Do formal advance directives affect resuscitation decisions and the use of resources for seriously ill patients? SUPPORT Investigators. Study to Understand Prognoses and Preferences for Outcomes and Risks of Treatments. J Clin Ethics 5 (1): 23-30, 1994.8003719
Pearlman RA, Starks H, Cain KC, et al.: Improvements in advance care planning in the Veterans Affairs System: results of a multifaceted intervention. Arch Intern Med 165 (6): 667-74, 2005.15795344
Detering KM, Hancock AD, Reade MC, et al.: The impact of advance care planning on end of life care in elderly patients: randomised controlled trial. BMJ 340: c1345, 2010.20332506
Kass-Bartelmes BL, Hughes R: Advance Care Planning, Preferences for Care at the End of Life: Research in Action, Issue 12. Rockville, Md: Agency for Healthcare Research and Quality, 2003. Available online (https://archive.ahrq.gov/research/findings/factsheets/aging/endliferia/endria.pdf). Last accessed Jan. 23, 2025.
Nicholas LH, Langa KM, Iwashyna TJ, et al.: Regional variation in the association between advance directives and end-of-life Medicare expenditures. JAMA 306 (13): 1447-53, 2011.21972306
Sudore RL, Fried TR: Redefining the "planning" in advance care planning: preparing for end-of-life decision making. Ann Intern Med 153 (4): 256-61, 2010.20713793
McMahan RD, Knight SJ, Fried TR, et al.: Advance care planning beyond advance directives: perspectives from patients and surrogates. J Pain Symptom Manage 46 (3): 355-65, 2013.23200188
Johnston G, Abraham C: Managing awareness: negotiating and coping with a terminal prognosis. Int J Palliat Nurs 6 (10): 485-94, 2000 Nov-Dec.12271247
Davey HM, Armstrong BK, Butow PN: An exploratory study of cancer patients' views on doctor-provided and independent written prognostic information. Patient Educ Couns 56 (3): 349-55, 2005.15721978
Barlési F, Barrau K, Loundou A, et al.: Impact of information on quality of life and satisfaction of non-small cell lung cancer patients: a randomized study of standardized versus individualized information before thoracic surgery. J Thorac Oncol 3 (10): 1146-52, 2008.18827611
Ong LM, Visser MR, Lammes FB, et al.: Effect of providing cancer patients with the audiotaped initial consultation on satisfaction, recall, and quality of life: a randomized, double-blind study. J Clin Oncol 18 (16): 3052-60, 2000.10944140
Bruera E, Pituskin E, Calder K, et al.: The addition of an audiocassette recording of a consultation to written recommendations for patients with advanced cancer: A randomized, controlled trial. Cancer 86 (11): 2420-5, 1999.10590386
El-Jawahri A, Podgurski LM, Eichler AF, et al.: Use of video to facilitate end-of-life discussions with patients with cancer: a randomized controlled trial. J Clin Oncol 28 (2): 305-10, 2010.19949010
Volandes AE, Paasche-Orlow MK, Mitchell SL, et al.: Randomized controlled trial of a video decision support tool for cardiopulmonary resuscitation decision making in advanced cancer. J Clin Oncol 31 (3): 380-6, 2013.23233708
El-Jawahri A, Traeger L, Greer JA, et al.: Randomized trial of a hospice video educational tool for patients with advanced cancer and their caregivers. Cancer 126 (15): 3569-3578, 2020.32508043
Clayton JM, Butow PN, Tattersall MH, et al.: Randomized controlled trial of a prompt list to help advanced cancer patients and their caregivers to ask questions about prognosis and end-of-life care. J Clin Oncol 25 (6): 715-23, 2007.17308275
Hebert RS, Schulz R, Copeland VC, et al.: Pilot testing of a question prompt sheet to encourage family caregivers of cancer patients and physicians to discuss end-of-life issues. Am J Hosp Palliat Care 26 (1): 24-32, 2009 Feb-Mar.18843134
Butow P, Devine R, Boyer M, et al.: Cancer consultation preparation package: changing patients but not physicians is not enough. J Clin Oncol 22 (21): 4401-9, 2004.15514382
Stein RA, Sharpe L, Bell ML, et al.: Randomized controlled trial of a structured intervention to facilitate end-of-life decision making in patients with advanced cancer. J Clin Oncol 31 (27): 3403-10, 2013.23897967
Leighl NB, Shepherd HL, Butow PN, et al.: Supporting treatment decision making in advanced cancer: a randomized trial of a decision aid for patients with advanced colorectal cancer considering chemotherapy. J Clin Oncol 29 (15): 2077-84, 2011.21483008
Jones L, Harrington J, Barlow CA, et al.: Advance care planning in advanced cancer: can it be achieved? An exploratory randomized patient preference trial of a care planning discussion. Palliat Support Care 9 (1): 3-13, 2011.21352613
Yun YH, Kang E, Park S, et al.: Efficacy of a Decision Aid Consisting of a Video and Booklet on Advance Care Planning for Advanced Cancer Patients: Randomized Controlled Trial. J Pain Symptom Manage 58 (6): 940-948.e2, 2019.31442484
Temel JS, Greer JA, Gallagher ER, et al.: Electronic prompt to improve outpatient code status documentation for patients with advanced lung cancer. J Clin Oncol 31 (6): 710-5, 2013.23284038
Yun YH, Lee MK, Park S, et al.: Use of a decision aid to help caregivers discuss terminal disease status with a family member with cancer: a randomized controlled trial. J Clin Oncol 29 (36): 4811-9, 2011.22105823
Brace C, Schmocker S, Huang H, et al.: Physicians' awareness and attitudes toward decision aids for patients with cancer. J Clin Oncol 28 (13): 2286-92, 2010.20354133
Ferrell BR, Temel JS, Temin S, et al.: Integration of Palliative Care Into Standard Oncology Care: American Society of Clinical Oncology Clinical Practice Guideline Update. J Clin Oncol 35 (1): 96-112, 2017.28034065
Lorenz KA, Lynn J, Dy SM, et al.: Evidence for improving palliative care at the end of life: a systematic review. Ann Intern Med 148 (2): 147-59, 2008.18195339
Zimmermann C, Swami N, Krzyzanowska M, et al.: Early palliative care for patients with advanced cancer: a cluster-randomised controlled trial. Lancet 383 (9930): 1721-30, 2014.24559581
Bakitas MA, Tosteson TD, Li Z, et al.: Early Versus Delayed Initiation of Concurrent Palliative Oncology Care: Patient Outcomes in the ENABLE III Randomized Controlled Trial. J Clin Oncol 33 (13): 1438-45, 2015.25800768
Bakitas M, Lyons KD, Hegel MT, et al.: Effects of a palliative care intervention on clinical outcomes in patients with advanced cancer: the Project ENABLE II randomized controlled trial. JAMA 302 (7): 741-9, 2009.19690306
Temel JS, Greer JA, Muzikansky A, et al.: Early palliative care for patients with metastatic non-small-cell lung cancer. N Engl J Med 363 (8): 733-42, 2010.20818875
Temel JS, Greer JA, Admane S, et al.: Longitudinal perceptions of prognosis and goals of therapy in patients with metastatic non-small-cell lung cancer: results of a randomized study of early palliative care. J Clin Oncol 29 (17): 2319-26, 2011.21555700
Greer JA, Pirl WF, Jackson VA, et al.: Effect of early palliative care on chemotherapy use and end-of-life care in patients with metastatic non-small-cell lung cancer. J Clin Oncol 30 (4): 394-400, 2012.22203758
Pirl WF, Greer JA, Traeger L, et al.: Depression and survival in metastatic non-small-cell lung cancer: effects of early palliative care. J Clin Oncol 30 (12): 1310-5, 2012.22430269
Jacobsen J, Jackson V, Dahlin C, et al.: Components of early outpatient palliative care consultation in patients with metastatic nonsmall cell lung cancer. J Palliat Med 14 (4): 459-64, 2011.21417739
Yoong J, Park ER, Greer JA, et al.: Early palliative care in advanced lung cancer: a qualitative study. JAMA Intern Med 173 (4): 283-90, 2013.23358690
Hannon B, Swami N, Pope A, et al.: The oncology palliative care clinic at the Princess Margaret Cancer Centre: an early intervention model for patients with advanced cancer. Support Care Cancer 23 (4): 1073-80, 2015.25281230
Dionne-Odom JN, Azuero A, Lyons KD, et al.: Benefits of Early Versus Delayed Palliative Care to Informal Family Caregivers of Patients With Advanced Cancer: Outcomes From the ENABLE III Randomized Controlled Trial. J Clin Oncol 33 (13): 1446-52, 2015.25800762
Hui D, Elsayem A, De la Cruz M, et al.: Availability and integration of palliative care at US cancer centers. JAMA 303 (11): 1054-61, 2010.20233823
Quill TE, Abernethy AP: Generalist plus specialist palliative care--creating a more sustainable model. N Engl J Med 368 (13): 1173-5, 2013.23465068
Wentlandt K, Krzyzanowska MK, Swami N, et al.: Referral practices of oncologists to specialized palliative care. J Clin Oncol 30 (35): 4380-6, 2012.23109708
Parikh RB, Kirch RA, Smith TJ, et al.: Early specialty palliative care--translating data in oncology into practice. N Engl J Med 369 (24): 2347-51, 2013.24328469
Gomes B: Palliative care: if it makes a difference, why wait? J Clin Oncol 33 (13): 1420-1, 2015.25800757
Temel JS, Jackson VA, Billings JA, et al.: Phase II study: integrated palliative care in newly diagnosed advanced non-small-cell lung cancer patients. J Clin Oncol 25 (17): 2377-82, 2007.17557950
Gaertner J, Wolf J, Hallek M, et al.: Standardizing integration of palliative care into comprehensive cancer therapy--a disease specific approach. Support Care Cancer 19 (7): 1037-43, 2011.21432009
Smith AK, Thai JN, Bakitas MA, et al.: The diverse landscape of palliative care clinics. J Palliat Med 16 (6): 661-8, 2013.23662953

## The Oncology Clinician’s Role in Planning the Transition to End-of-Life Care

### Perspective

In 1961, a survey of 219 physicians was published, with 88% of respondents indicating that their “usual policy about telling patients” they have cancer was “don’t tell”; however, 34% of the group indicated that they occasionally made exceptions and disclosed the diagnosis, most often to family members.[1] The identical survey was repeated in 1977, with a different group of 264 physicians; at that time, 98% of respondents indicated that telling a patient about the diagnosis of cancer was their usual policy, although 28% reported occasionally making an exception.[2]

Despite this progress, the effective communication of prognosis remains a challenge, as measured by patient-reported estimates of life expectancy or goals of treatment. For example, a 1984 study reported that 37% of patients with metastatic, incurable cancer felt that treatment would cure their disease.[3] Similarly, another study reported in 2012 that 69% of patients with advanced lung cancer and 81% of patients with advanced colorectal cancer enrolled in the Cancer Care Outcomes Research and Surveillance (CanCORS) study were unaware that chemotherapy was not likely to cure their disease.[4] In fact, almost 40% of patients with colorectal cancer responded that chemotherapy was very likely to cure the disease. A related analysis of the CanCORS data set revealed that only 16.5% of patients reported an accurate awareness of their prognosis.[5] Similar results have been reported from a study of patients with advanced cancer that assessed their understanding of their prognosis at enrollment and 12 weeks later.[6]

Potential explanations for the communication deficits regarding prognosis are summarized in the Potential Barriers to Planning the Transition to End-of-Life Care section. Regardless of the explanation, however, misunderstandings about prognosis compromise a patient’s ability to make informed health care decisions consistent with his or her values, goals, and preferences. Ultimately, each oncology clinician chooses, on some level, when and how to explain to a patient with advanced cancer that disease-directed treatments are unlikely to prove effective and a continued focus on treatment risks harming the patient.

The goal of this summary section is to provide clinicians with frameworks for considering their role in planning the transition to end-of-life (EOL) care and discussing the concept of transition with patients and their loved ones.

### The Patient-Clinician Relationship and Planning the Transition to EOL Care

It is important for oncology clinicians to consider how their relationship with patients will help patients express preferences that are consistent with their values and goals for receiving high-quality EOL care. One study proposed the following four models of the physician-patient relationship, based on the goals of the interaction, the physician’s obligations, the role of patient values, and how patient autonomy influences the relationship:[7]

- Paternalistic: The focus is on the physician’s assessment and judgment of best treatment, with limited or no patient participation, other than providing consent.
- Informative: The focus is on the physician providing the patient with disease and treatment information that is as complete as possible, with decision making left to the patient.
- Interpretive: The physician acts as a counselor to help the patient discern his or her values and preferences, provides medical information, and then advises the patient about which appropriate tests and treatments best reflect the patient’s values.
- Deliberative: The physician’s role is to assist the patient in both determining and choosing the best health-related goals and options, with the attitude of a friend or teacher. The physician plays an active part in suggesting which values and options are most worthy.

In a carefully reasoned argument, the authors concluded that the preferred choice is the deliberative model, which can be paraphrased as a belief that patients’ goals and preferences are open to development and evolution. The goal of this relationship is to help the patient choose the best health-related goals and options that can be achieved, given the clinical situation. The physician’s obligation is to articulate for the patient the most compelling goals and preferences and to inform the patient of other options. In that sense, the physician is a teacher.[7]

Qualitative studies of patients’ perception of decision making suggest that the deliberative clinician-patient relationship is especially critical in advanced-stage cancer. For example, one group of investigators interviewed 36 patients with potentially curable esophageal cancer about their decision to undergo esophagectomy. The investigators anticipated that themes related to autonomy, shared decision making, and information disclosure would become apparent; however, the following themes emerged:[8]

1. Cultural belief in surgical cure.
2. Enhancement of trust through the referral process.
3. Idealization of the specialist surgeon.
4. Belief in expertise rather than medical information.
5. Resignation to the risks of treatment.
6. Acceptance of an expert recommendation as consent to treatment.

Another group of investigators interviewed patients with pancreatic carcinoma and identified a change in attitudes toward treatment decision making over time.[9] Initially, patients described little interest in details about medical or surgical treatments and emphasized their trust in the physician. Later, as patients had more experience with disease progression and treatment, they described seeking a more proactive role in treatment decisions. All patients reported discussions about their poor prognosis, but a common theme was the difficulty in recognizing when it was time to stop treatment and transition to EOL care.

### Planning the Transition From Diagnosis to EOL Care

The word transition implies a passage from one place to another. Planning the transition to EOL care, therefore, requires a shared understanding of where the patient is in the advanced-cancer trajectory and why a transition is necessary or advisable.

The appropriate time to transition to EOL care is when the change is most consistent with the patient’s goals of care. In determining when to transition to EOL care, the oncology clinician strives to be a teacher and trusted friend. The clinician must present his or her opinion of the effectiveness of continued cancer-directed treatments and help the patient understand the patient’s own values, perspectives, goals of care, and preferences. In this way, the clinician aids the patient in constructing treatment and care preferences toward the EOL.[10]

The concept of transition is often invoked from the health care provider’s perspective.[11,12] For example, patients who received adjuvant chemotherapy with curative intent are often spoken of as making a transition from the curative to the palliative phase of treatment.

The figure below depicts a phase model of planning the transition to EOL care for patients with advanced cancer.

A phase model of planning the transition to end-of-life (EOL) care in advanced cancer. The trajectory of advanced cancer begins with the realization that disease-directed treatments are no longer curative. Over time, the patient, family, and oncology clinician should strive to develop a shared understanding of available treatments and recognize when the likelihood of benefit decreases in relation to the potential harm of treatment. LST = life-sustaining treatment; EOL = end-of-life

Diagram showing a phase model of planning the transition to end-of-life (EOL) care in advanced cancer.

Panel A of the figure demonstrates the increasingly unfavorable risk-benefit ratio of disease-directed treatments over time. This conceptualization is also from the oncology clinician’s perspective. The oncology clinician could choose two tactics to develop a shared understanding of the decline in the risk-to-benefit ratio:

- Distinguish between effectiveness and benefit: The health care decisions of patients with advanced cancer toward the EOL may, at times, seem contrary to their best interests from the clinician’s perspective.[13] A relevant explanation for the difference may be that patients think in terms of benefit, which includes both the chance of an outcome and its desirability, while clinicians think in terms of the evidence of effectiveness, which is assessed with probabilities.[14]
- Explore patient’s understanding of their prognosis and their goals at sentinel events: There are relatively discrete points in the disease trajectory, called sentinel events, when the oncologist has an opportunity to clarify prognosis and discern patient goals and preferences.[15] Sentinel events include scheduled assessments of the disease status (e.g., repeat tumor measurements after a prespecified number of cycles of chemotherapy), effects of chemotherapy on overall health-related quality of life, and the side effects of or complications from disease progression or therapy (e.g., decline in performance status).

Panel B of the figure represents the concept of transitions. The disease trajectory is divided into five relatively discrete phases, from the diagnosis of advanced cancer to death. The first two phases are dominated by disease-directed strategies, including a phase in which the intent of disease-directed treatment is cure and a second phase in which the intent of treatment is symptom relief, disease control, and, perhaps, improved life expectancy. The EOL phase is subdivided into a time in which the patient is not receiving therapy but may still anticipate treatment in the future, and a phase in which the goal of care is to ensure that the EOL is free from undue burden or distress. Similar figures are often modified to include a diagonal line depicting a gradual increase in the focus on palliative care as the cancer progresses and life is more likely to end.

The figure represents the advanced-cancer trajectory to help oncologists formulate and articulate the potentially salient differences between the phases from the oncologist’s perspective in terms of the following:

- Treatment options, intent, range of possible outcomes, and likelihood of potential outcomes.
- The likely experience, including potential risks and the burden of each option in terms of side effects and practical requirements of treatment.
- Key activities (e.g., chemotherapy), scheduled assessments of disease status, and the treatment experience associated with each option or phase.

The oncology clinician should then endeavor to communicate the information in a compassionate manner that is comprehensible to the patient and family. For more information, see the Strategies to Improve Patient-Oncologist Communication and Decision Making in Advanced Cancer section.

Clearly describing each phase, however, does not necessarily inform patients of when it is time to transition. A focus group study of health care providers, patients with advanced cancer and other terminal illnesses, and family members prioritized three discrete communication skills as valuable to the dying person:[16]

- Giving bad news sensitively.
- Talking about dying.
- Knowing when the patient was ready to talk about dying.

In conclusion, the right time to transition from disease-directed treatments toward EOL care depends, in large part, on the patient’s goals and preferences. The evidence indicates that conversations about EOL care are difficult but of great benefit to the patient. Oncologists who delay initiating these important conversations or who communicate in ambiguous or difficult-to-understand language fail to meet “the physician’s central task in caring for a gravely ill person near death[, which] is to accompany and guide the patient, who as a rule does not want to be dead, through the critical transition.”[17]

### References

OKEN D: What to tell cancer patients. A study of medical attitudes. JAMA 175: 1120-8, 1961.13730593
Novack DH, Plumer R, Smith RL, et al.: Changes in physicians' attitudes toward telling the cancer patient. JAMA 241 (9): 897-900, 1979.762865
Eidinger RN, Schapira DV: Cancer patients' insight into their treatment, prognosis, and unconventional therapies. Cancer 53 (12): 2736-40, 1984.6326993
Weeks JC, Catalano PJ, Cronin A, et al.: Patients' expectations about effects of chemotherapy for advanced cancer. N Engl J Med 367 (17): 1616-25, 2012.23094723
Liu PH, Landrum MB, Weeks JC, et al.: Physicians' propensity to discuss prognosis is associated with patients' awareness of prognosis for metastatic cancers. J Palliat Med 17 (6): 673-82, 2014.24742212
Craft PS, Burns CM, Smith WT, et al.: Knowledge of treatment intent among patients with advanced cancer: a longitudinal study. Eur J Cancer Care (Engl) 14 (5): 417-25, 2005.16274462
Emanuel EJ, Emanuel LL: Four models of the physician-patient relationship. JAMA 267 (16): 2221-6, 1992 Apr 22-29.1556799
McKneally MF, Martin DK: An entrustment model of consent for surgical treatment of life-threatening illness: perspective of patients requiring esophagectomy. J Thorac Cardiovasc Surg 120 (2): 264-9, 2000.10917940
Schildmann J, Ritter P, Salloch S, et al.: 'One also needs a bit of trust in the doctor ... ': a qualitative interview study with pancreatic cancer patients about their perceptions and views on information and treatment decision-making. Ann Oncol 24 (9): 2444-9, 2013.23704195
Epstein RM, Peters E: Beyond information: exploring patients' preferences. JAMA 302 (2): 195-7, 2009.19584351
Agren Bolmsjö I, Nilstun T, Löfmark R: From cure to palliation: agreement, timing, and decision making within the staff. Am J Hosp Palliat Care 24 (5): 366-70, 2007 Oct-Nov.17601832
Gramling R, Norton SA, Ladwig S, et al.: Direct observation of prognosis communication in palliative care: a descriptive study. J Pain Symptom Manage 45 (2): 202-12, 2013.22652135
Matsuyama R, Reddy S, Smith TJ: Why do patients choose chemotherapy near the end of life? A review of the perspective of those facing death from cancer. J Clin Oncol 24 (21): 3490-6, 2006.16849766
Pellegrino ED: Decisions to withdraw life-sustaining treatment: a moral algorithm. JAMA 283 (8): 1065-7, 2000.10697071
Walling A, Lorenz KA, Dy SM, et al.: Evidence-based recommendations for information and care planning in cancer care. J Clin Oncol 26 (23): 3896-902, 2008.18688058
Wenrich MD, Curtis JR, Shannon SE, et al.: Communicating with dying patients within the spectrum of medical care from terminal diagnosis to death. Arch Intern Med 161 (6): 868-74, 2001.11268231
Finucane TE: How gravely ill becomes dying: a key to end-of-life care. JAMA 282 (17): 1670-2, 1999.10553796

## Latest Updates to This Summary (02/12/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Overview

Updated statistics with estimated new deaths for 2025 (cited American Cancer Society as reference 1).

Factors That Influence End-of-Life Care Decisions and Outcomes

Updated American Cancer Society as reference 7.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about planning for end-of-life care in advanced cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Planning the Transition to End-of-Life Care in Advanced Cancer are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- Natalie Jacobowski, MD (Nationwide Children's Hospital)
- Jared R. Lowe, MD, HMDC (University of North Carolina School of Medicine)
- Maria Petzel, RD, CSO, LD, CNSC, FAND (University of TX MD Anderson Cancer Center)
- Joanna J. Sharpless, MD (University of California San Francisco)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Planning the Transition to End-of-Life Care in Advanced Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/planning/end-of-life-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389513]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).